# Esophageal Cancer Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult esophageal cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Esophageal Cancer

Two histological types account for most malignant esophageal neoplasms: adenocarcinoma and squamous cell carcinoma. Adenocarcinomas typically start in the lower esophagus, and squamous cell carcinoma can develop throughout the esophagus. The epidemiology of these types varies markedly.

### Incidence and Mortality

Estimated new cases and deaths from esophageal cancer in the United States in 2025:[1]

- New cases: 22,070.
- Deaths: 16,250.

The incidence of esophageal cancer has risen in recent decades, coinciding with a shift in histological type and primary tumor location. Worldwide, squamous cell carcinoma is the predominant histology, and was historically more prevalent in the United States. However, the incidence of adenocarcinoma has risen dramatically in the last few decades and is now more prevalent than squamous cell carcinoma in the United States and western Europe.[2-4] The incidence of adenocarcinoma has increased most notably among White men.[5] In the United States, the median age of patients who present with esophageal cancer is 68 years.[6] Most adenocarcinomas are located in the distal esophagus. The cause of the rising incidence and demographic alterations is unknown.

### Anatomy

The esophagus and stomach are part of the upper gastrointestinal (digestive) system.

Gastrointestinal (digestive) system anatomy; drawing shows the esophagus, liver, stomach, small intestine, and large intestine.

The esophagus serves as a conduit to the gastrointestinal tract for food. The esophagus extends from the larynx to the stomach and lies in the posterior mediastinum within the thorax near the lung pleura, peritoneum, pericardium, and diaphragm. As it travels into the abdominal cavity, the esophagus makes an abrupt turn and enters the stomach. The most muscular segment of the gastrointestinal system, the esophagus is composed of inner circular and outer longitudinal muscle layers. The upper and lower esophagus are controlled by the sphincter function of the cricopharyngeus muscle and gastroesophageal sphincter, respectively. The esophagus has a rich network of lymphatic channels concentrated in the lamina propria and submucosa, which drains longitudinally along the submucosa.

Tumors of the esophagus are conventionally described in terms of distance of the upper border of the tumor to the incisors. When measured from the incisors via endoscopy, the esophagus extends approximately 30 cm to 40 cm. The esophagus is divided into four main segments:

1. Cervical esophagus (~15–20 cm from the incisors).
2. Upper thoracic esophagus (~20–25 cm from the incisors).
3. Middle thoracic esophagus (~25–30 cm from the incisors).
4. Lower thoracic esophagus and gastroesophageal junction (~30–40 cm from the incisors).

### Risk Factors

Risk factors for squamous cell carcinoma of the esophagus include:

- Tobacco use.
- Alcohol use.

Risk factors associated with esophageal adenocarcinoma are less clear.[3] Barrett esophagus is an exception, and its presence is associated with an increased risk of developing adenocarcinoma of the esophagus. Chronic reflux is considered the predominant cause of Barrett metaplasia. The results of a population-based, case-controlled study from Sweden strongly suggest that symptomatic gastroesophageal reflux is a risk factor for esophageal adenocarcinoma. The frequency, severity, and duration of reflux symptoms were positively correlated with increased risk of esophageal adenocarcinoma.[7] For more information, see Esophageal Cancer Prevention.

### Prognostic Factors

Favorable prognostic factors include:

- Early-stage disease.
- Complete resection.

Patients with severe dysplasia in distal esophageal Barrett mucosa often have in situ or invasive cancer within the dysplastic area. After resection, these patients usually have excellent prognoses.[8]

In most cases, esophageal cancer is a treatable disease, but it is rarely curable. The 5-year relative survival rate is 21.6%. Patients with early-stage disease have a better chance of survival; 18.2% of patients are diagnosed at the local stage and have a 5-year relative survival rate of 48.1%.[6]

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Brown LM, Devesa SS, Chow WH: Incidence of adenocarcinoma of the esophagus among white Americans by sex, stage, and age. J Natl Cancer Inst 100 (16): 1184-7, 2008.18695138
Blot WJ, McLaughlin JK: The changing epidemiology of esophageal cancer. Semin Oncol 26 (5 Suppl 15): 2-8, 1999.10566604 20030880
Schmassmann A, Oldendorf MG, Gebbers JO: Changing incidence of gastric and oesophageal cancer subtypes in central Switzerland between 1982 and 2007. Eur J Epidemiol 24 (10): 603-9, 2009.19669623
Kubo A, Corley DA: Marked multi-ethnic variation of esophageal and gastric cardia carcinomas within the United States. Am J Gastroenterol 99 (4): 582-8, 2004.15089886
National Cancer Institute: SEER Cancer Stat Facts: Esophageal Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/esoph.html). Last accessed February 7, 2025.
Lagergren J, Bergström R, Lindgren A, et al.: Symptomatic gastroesophageal reflux as a risk factor for esophageal adenocarcinoma. N Engl J Med 340 (11): 825-31, 1999.10080844 99165315
Reed MF, Tolis G, Edil BH, et al.: Surgical treatment of esophageal high-grade dysplasia. Ann Thorac Surg 79 (4): 1110-5; discussion 1110-5, 2005.15797034

## Cellular Classification of Esophageal Cancer

Adenocarcinomas, typically arising in Barrett esophagus, account for at least 50% of malignant lesions, and the incidence of this histology appears to be rising. Barrett esophagus contains glandular epithelium cephalad to the esophagogastric junction.

Three different types of glandular epithelium can be seen:

- Metaplastic columnar epithelium.
- Metaplastic parietal cell glandular epithelium within the esophageal wall.
- Metaplastic intestinal epithelium with typical goblet cells. Dysplasia is particularly likely to develop in the intestinal-type mucosa.

Approximately 30% of esophageal cancers in the United States are squamous cell carcinomas.[1]

Gastrointestinal stromal tumors can occur in the esophagus and are usually benign. For more information, see Gastrointestinal Stromal Tumors Treatment.

### References

Howlader N, Noone AM, Krapcho M, et al.: SEER Cancer Statistics Review (CSR) 1975-2017. Bethesda, Md: National Cancer Institute, 2020. Available online (https://seer.cancer.gov/csr/1975_2017/). Last accessed February 7, 2025.

## Stage Information for Esophageal Cancer

One of the major difficulties in allocating and comparing treatment modalities for patients with esophageal cancer is the lack of precise preoperative staging. The stage determines whether the intent of the therapeutic approach will be curative or palliative.

### Staging Evaluation

Standard noninvasive staging modalities include:

- Endoscopic ultrasonography.
- Computed tomography (CT) scan of the chest and abdomen.
- Positron emission tomography (PET)–CT scan.

The overall tumor depth staging accuracy of endoscopic ultrasonography is 85% to 90%, compared with 50% to 80% for CT. The accuracy of regional nodal staging is 70% to 80% for endoscopic ultrasonography and 50% to 70% for CT.[1,2]

One retrospective series reported 93% sensitivity and 100% specificity of regional nodal staging with endoscopic ultrasound-guided fine-needle aspiration (FNA). Endoscopic ultrasound-guided FNA for lymph node staging is under prospective evaluation.[3]

Thoracoscopy and laparoscopy have been used in esophageal cancer staging at some surgical centers.[4-6] An intergroup trial reported an increase in positive lymph node detection to 56% of 107 evaluable patients with the use of thoracoscopy/laparoscopy, from 41% (with the use of noninvasive staging tests, e.g., CT, magnetic resonance imaging, and endoscopic ultrasound), with no major complications or deaths.[7]

Noninvasive PET scan using the radiolabeled glucose analog fluorine F 18-fludeoxyglucose (18F-FDG) for preoperative staging of esophageal cancer is more sensitive than a CT scan or endoscopic ultrasound in detection of distant metastases. A recent study of 262 patients with potentially resectable esophageal cancer demonstrated the utility of 18F-FDG PET in identifying confirmed distant metastatic disease in at least 4.8% of patients after standard evaluation.[8-12]

### AJCC Staging System

The AJCC has designated staging by TNM (tumor, node, metastasis) classification to define cancer of the esophagus and esophagogastric junction.[13] Tumors located in the gastric cardia within 5 cm of the gastroesophageal junction with extension into the esophagus or the gastroesophageal junction are classified as esophageal cancer. Tumors with the epicenter of the tumor located in the gastric cardia beyond 5 cm of the gastroesophageal junction or without extension into the esophagus are classified as gastric cancer.[13] For more information, see the Stage Information for Gastric Cancer section in Gastric Cancer Treatment.

The classification of involved abdominal lymph nodes as M1 disease is controversial. The presence of positive abdominal lymph nodes does not appear to have a prognosis as grave as that for metastases to distant organs.[14] Patients with regional and/or celiac axis lymphadenopathy should not necessarily be considered to have unresectable disease caused by metastases. Complete resection of the primary tumor and appropriate lymphadenectomy is attempted when possible.

Table 1. Definitions of Primary Tumor, Regional Lymph Node, Distant Metastasis, Histological Grade for Squamous Cell Carcinoma and Adenocarcinoma, and Location for Squamous Cell Carcinoma of the Esophagus^a^

T Category/Criteria | N Category/Criteria | M Category/Criteria | G Definition | L Category/Criteria^b^
TX = Tumor cannot be assessed. | NX = Regional lymph nodes cannot be assessed. | M0 = No distant metastasis. | GX = Grade cannot be assessed. | X = Location unknown.
T0 = No evidence of primary tumor. | N0 = No regional lymph node metastasis. | M1 = Distant metastasis. | G1 = Well differentiated. | Upper = Cervical esophagus to lower border of azygos vein.
Tis = High-grade dysplasia, defined as malignant cells confined to the epithelium by the basement membrane. | N1 = Metastasis in one or two regional lymph nodes. | | G2 = Moderately differentiated. | Middle = Lower border of azygos vein to lower border of inferior pulmonary vein.
Tis = High-grade dysplasia, defined as malignant cells confined to the epithelium by the basement membrane. | N1 = Metastasis in one or two regional lymph nodes. | | G3 = Poorly differentiated, undifferentiated. | Lower = Lower border of inferior pulmonary vein to stomach, including gastroesophageal junction.
T1 = Tumor invades the lamina propria, muscularis mucosae, or submucosa. | N2 = Metastasis in three to six regional lymph nodes.
T1 = Tumor invades the lamina propria, muscularis mucosae, or submucosa. | N3 = Metastasis in seven or more regional lymph nodes.
T1a = Tumor invades the lamina propria or muscularis mucosae.
T1b = Tumor invades the submucosa.
T2 = Tumor invades the muscularis propria.
T3 = Tumor invades adventitia.
T4 = Tumor invades adjacent structures.
T4a = Tumor invades the pleura, pericardium, azygos vein, diaphragm, or peritoneum.
T4b = Tumor invades other adjacent structures, such as the aorta, vertebral body, or airway.

T = primary tumor; N = regional lymph nodes; M = distant metastasis; G = grade; L = location.

^a^Reprinted with permission from AJCC: Esophageal and esophagogastric junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 185–202.

^b^Location is defined by the position of the epicenter of the tumor in the esophagus.

#### Staging for squamous cell carcinoma of the esophagus

Table 2. Definitions of pTNM Stage 0 for Squamous Cell Carcinoma of the Esophagus^a^

Stage | TNM | Grade | Tumor Location | Description | Illustration
0 | Tis, N0, M0 | N/A | Any | Tis = High grade dysplasia, defined as malignant cells confined to the epithelium by the basement membrane. | Stage 0 squamous cell carcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows cancer cells in the inner lining of the esophagus wall. Also shown are the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall. The lymph nodes are also shown.
0 | Tis, N0, M0 | N/A | Any | N0 = No regional lymph node metastasis.
0 | Tis, N0, M0 | N/A | Any | M0 = No distant metastasis.
0 | Tis, N0, M0 | N/A | Any | G1 = N/A.
0 | Tis, N0, M0 | N/A | Any | Any L = See Table 1.

T = primary tumor; N = regional lymph nodes; M = distant metastasis; G = grade; L = location; N/A = not applicable; p = pathological.

^a^Reprinted with permission from AJCC: Esophageal and esophagogastric junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 185–202

Table 3. Definitions of pTNM Stages IA and IB for Squamous Cell Carcinoma of the Esophagus^a^

Stage | TNM | Grade | Tumor Location | Description | Illustration
IA | T1a, N0, M0 | G1 | Any | –T1a = Tumor invades the lamina propria or muscularis mucosae. | Stage IA squamous cell carcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows grade 1 cancer cells or cancer cells of an unknown grade in the mucosa layer and thin muscle layer of the esophagus wall. Also shown are the submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall. The lymph nodes are also shown.
IA | T1a, N0, M0 | G1 | Any | N0 = No regional lymph node metastasis.
IA | T1a, N0, M0 | G1 | Any | M0 = No distant metastasis.
IA | T1a, N0, M0 | G1 | Any | G1 = Well differentiated.
IA | T1a, N0, M0 | G1 | Any | Any L = See Table 1.
IA | T1a, N0, M0 | GX | Any | –T1a = Tumor invades the lamina propria or muscularis mucosae.
IA | T1a, N0, M0 | GX | Any | N0 = No regional lymph node metastasis.
IA | T1a, N0, M0 | GX | Any | M0 = No distant metastasis.
IA | T1a, N0, M0 | GX | Any | GX = Grade cannot be assessed.
IA | T1a, N0, M0 | GX | Any | Any L = See Table 1.
IB | T1a, N0, M0 | G2–G3 | Any | –T1a = Tumor invades the lamina propria or muscularis mucosae. | Stage IB squamous cell carcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The lymph nodes are also shown. The left panel shows cancer cells that are any grade or of an unknown grade in the mucosa layer, thin muscle layer, and submucosa layer. The right panel shows grade 1 cancer cells in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer.
IB | T1a, N0, M0 | G2–G3 | Any | N0 = No regional lymph node metastasis.
IB | T1a, N0, M0 | G2–G3 | Any | M0 = No distant metastasis.
IB | T1a, N0, M0 | G2–G3 | Any | G2 = Moderately differentiated.
IB | T1a, N0, M0 | G2–G3 | Any | G3 = Poorly differentiated, undifferentiated.
IB | T1a, N0, M0 | G2–G3 | Any | Any L = See Table 1.
IB | T1b, N0, M0 | G1–G3 | Any | –T1b = Tumor invades the submucosa.
IB | T1b, N0, M0 | G1–G3 | Any | N0 = No regional lymph node metastasis.
IB | T1b, N0, M0 | G1–G3 | Any | M0 = No distant metastasis.
IB | T1b, N0, M0 | G1–G3 | Any | G1 = Well differentiated.
IB | T1b, N0, M0 | G1–G3 | Any | G2 = Moderately differentiated.
IB | T1b, N0, M0 | G1–G3 | Any | G3 = Poorly differentiated, undifferentiated.
IB | T1b, N0, M0 | G1–G3 | Any | Any L = See Table 1.
IB | T1b, N0, M0 | GX | Any | –T1b = Tumor invades the submucosa.
IB | T1b, N0, M0 | GX | Any | N0 = No regional lymph node metastasis.
IB | T1b, N0, M0 | GX | Any | M0 = No distant metastasis.
IB | T1b, N0, M0 | GX | Any | GX = Grade cannot be assessed.
IB | T1b, N0, M0 | GX | Any | Any L = See Table 1.
IB | T2, N0, M0 | G1 | Any | T2 = Tumor invades the muscularis propria.
IB | T2, N0, M0 | G1 | Any | N0 = No regional lymph node metastasis.
IB | T2, N0, M0 | G1 | Any | M0 = No distant metastasis.
IB | T2, N0, M0 | G1 | Any | G1 = Well differentiated.
IB | T2, N0, M0 | G1 | Any | Any L = See Table 1.

T = primary tumor; N = regional lymph nodes; M = distant metastasis; G = grade; L = location; p = pathological.

^a^Reprinted with permission from AJCC: Esophageal and esophagogastric junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 185–202.

Table 4. Definitions of pTNM Stages IIA and IIB for Squamous Cell Carcinoma of the Esophagus^a^

Stage | TNM | Grade | Tumor Location^b^ | Description | Illustration
IIA | T2, N0, M0 | GX | Any | T2 = Tumor invades the muscularis propria. | Stage IIA squamous cell carcinoma of the esophagus (1); drawing shows the esophagus and stomach. An inset shows grade 2 or 3 cancer cells or cancer cells of an unknown grade in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer of the esophagus wall. Also shown are the connective tissue layer of the esophagus wall and the lymph nodes.; Stage IIA squamous cell carcinoma of the esophagus (2); drawing shows the esophagus, including the lower part of the esophagus, and the stomach. An inset shows cancer cells of any grade in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the lower esophagus wall. The lymph nodes are also shown.; Stage IIA squamous cell carcinoma of the esophagus (3); drawing shows the upper and middle parts of the esophagus and the stomach. An inset shows grade 1 cancer cells in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the upper and middle esophagus wall. The lymph nodes are also shown.
IIA | T2, N0, M0 | GX | Any | N0 = No regional lymph node metastasis.
IIA | T2, N0, M0 | GX | Any | M0 = No distant metastasis.
IIA | T2, N0, M0 | GX | Any | GX = Grade cannot be assessed.
IIA | T2, N0, M0 | GX | Any | Any L = See Table 1.
IIA | T2, N0, M0 | G2–G3 | Any | T2 = Tumor invades the muscularis propria.
IIA | T2, N0, M0 | G2–G3 | Any | N0 = No regional lymph node metastasis.
IIA | T2, N0, M0 | G2–G3 | Any | M0 = No distant metastasis.
IIA | T2, N0, M0 | G2–G3 | Any | G2 = Moderately differentiated.
IIA | T2, N0, M0 | G2–G3 | Any | G3 = Poorly differentiated, undifferentiated.
IIA | T2, N0, M0 | G2–G3 | Any | Any L = See Table 1.
IIA | T3, N0, M0 | Any | Lower | T3 = Tumor invades adventitia.
IIA | T3, N0, M0 | Any | Lower | N0 = No regional lymph node metastasis.
IIA | T3, N0, M0 | Any | Lower | M0 = No distant metastasis.
IIA | T3, N0, M0 | Any | Lower | Any G = See Table 1.
IIA | T3, N0, M0 | Any | Lower | Lower = Lower border of inferior pulmonary vein to stomach, including gastroesophageal junction.
IIA | T3, N0, M0 | G1 | Upper/middle | T3 = Tumor invades adventitia.
IIA | T3, N0, M0 | G1 | Upper/middle | N0 = No regional lymph node metastasis.
IIA | T3, N0, M0 | G1 | Upper/middle | M0 = No distant metastasis.
IIA | T3, N0, M0 | G1 | Upper/middle | G1 = Well differentiated.
IIA | T3, N0, M0 | G1 | Upper/middle | Upper = Cervical esophagus to lower border of azygos vein.
IIA | T3, N0, M0 | G1 | Upper/middle | Middle = Lower border of azygos vein to lower border of inferior pulmonary vein.
IIB | T3, N0, M0 | G2–G3 | Upper/middle | T3 = Tumor invades adventitia. | Stage IIB squamous cell carcinoma of the esophagus (1); drawing shows the upper and middle parts of the esophagus and the stomach. An inset shows grade 2 or 3 cancer cells in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the upper and middle esophagus wall.; Stage IIB squamous cell carcinoma of the esophagus (2); drawing shows the esophagus and stomach. An inset shows (a) cancer cells of an unknown grade in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall. Also shown is (b) the location of the tumor in the esophagus is unknown.; Stage IIB squamous cell carcinoma of the esophagus (3); drawing shows the esophagus and stomach. An inset shows cancer cells of any grade in the mucosa layer, thin muscle layer, and submucosa layer of the esophagus wall. Also shown are the thick muscle layer and connective tissue layer of the esophagus wall and cancer in 1 lymph node near the tumor.
IIB | T3, N0, M0 | G2–G3 | Upper/middle | N0 = No regional lymph node metastasis.
IIB | T3, N0, M0 | G2–G3 | Upper/middle | M0 = No distant metastasis.
IIB | T3, N0, M0 | G2–G3 | Upper/middle | G2 = Moderately differentiated.
IIB | T3, N0, M0 | G2–G3 | Upper/middle | G3 = Poorly differentiated, undifferentiated.
IIB | T3, N0, M0 | G2–G3 | Upper/middle | Upper = Cervical esophagus to lower border of azygos vein.
IIB | T3, N0, M0 | G2–G3 | Upper/middle | Middle = Lower border of azygos vein to lower border of inferior pulmonary vein.
IIB | T3, N0, M0 | GX | Any | T3 = Tumor invades adventitia.
IIB | T3, N0, M0 | GX | Any | N0 = No regional lymph node metastasis.
IIB | T3, N0, M0 | GX | Any | M0 = No distant metastasis.
IIB | T3, N0, M0 | GX | Any | GX = Grade cannot be assessed.
IIB | T3, N0, M0 | GX | Any | Any L = See Table 1.
IIB | T3, N0, M0 | Any | Location X | T3 = Tumor invades adventitia.
IIB | T3, N0, M0 | Any | Location X | N0 = No regional lymph node metastasis.
IIB | T3, N0, M0 | Any | Location X | M0 = No distant metastasis.
IIB | T3, N0, M0 | Any | Location X | Any G = See Table 1.
IIB | T3, N0, M0 | Any | Location X | Location X = Location unknown.
IIB | T1, N1, M0 | Any | Any | T1 = Tumor invades the lamina propria, muscularis mucosae, or submucosa.
IIB | T1, N1, M0 | Any | Any | N1 = Metastasis in one or two regional lymph nodes.
IIB | T1, N1, M0 | Any | Any | M0 = No distant metastasis.
IIB | T1, N1, M0 | Any | Any | Any G = See Table 1.
IIB | T1, N1, M0 | Any | Any | Any L = See Table 1.

T = primary tumor; N = regional lymph nodes; M = distant metastasis; G = grade; L = location; p = pathological.

^a^Reprinted with permission from AJCC: Esophageal and esophagogastric junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 185–202.

^b^Location is defined by the position of the epicenter of the tumor in the esophagus.

Table 5. Definitions of pTNM Stages IIIA and IIIB for Squamous Cell Carcinoma of the Esophagus^a^

Stage | TNM | Grade | Tumor Location^b^ | Description | Illustration
IIIA | T1, N2, M0 | Any | Any | T1 = Tumor invades the lamina propria, muscularis mucosae, or submucosa. | Stage IIIA squamous cell carcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The left panel shows cancer in the mucosa layer, thin muscle layer, and submucosa layer and in 3 lymph nodes near the tumor. The right panel shows cancer in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer and in 1 lymph node near the tumor.
IIIA | T1, N2, M0 | Any | Any | –T1a = Tumor invades the lamina propria or muscularis mucosae.
IIIA | T1, N2, M0 | Any | Any | –T1b = Tumor invades the submucosa.
IIIA | T1, N2, M0 | Any | Any | N2 = Metastasis in three to six regional lymph nodes.
IIIA | T1, N2, M0 | Any | Any | M0 = No distant metastasis.
IIIA | T1, N2, M0 | Any | Any | Any G = See Table 1.
IIIA | T1, N2, M0 | Any | Any | Any L = See Table 1.
IIIA | T2, N1, M0 | Any | Any | T2 = Tumor invades the muscularis propria.
IIIA | T2, N1, M0 | Any | Any | N1 = Metastasis in one or two regional lymph nodes.
IIIA | T2, N1, M0 | Any | Any | M0 = No distant metastasis.
IIIA | T2, N1, M0 | Any | Any | Any G = See Table 1.
IIIA | T2, N1, M0 | Any | Any | Any L = See Table 1.
IIIB | T2, N2, M0 | Any | Any | T2 = Tumor invades the muscularis propria. | Stage IIIB squamous cell carcinoma of the esophagus (1); drawing shows the esophagus and stomach. An inset shows cancer cells in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall and in 4 lymph nodes near the tumor.
IIIB | T2, N2, M0 | Any | Any | N2 = Metastasis in three to six regional lymph nodes.
IIIB | T2, N2, M0 | Any | Any | M0 = No distant metastasis.
IIIB | T2, N2, M0 | Any | Any | Any G = See Table 1.
IIIB | T2, N2, M0 | Any | Any | Any L = See Table 1.
IIIB | T3, N1–N2, M0 | Any | Any | T3 = Tumor invades adventitia.
IIIB | T3, N1–N2, M0 | Any | Any | N1 = Metastasis in one or two regional lymph nodes.
IIIB | T3, N1–N2, M0 | Any | Any | N2 = Metastasis in three to six regional lymph nodes.
IIIB | T3, N1–N2, M0 | Any | Any | M0 = No distant metastasis.
IIIB | T3, N1–N2, M0 | Any | Any | Any G = See Table 1.
IIIB | T3, N1–N2, M0 | Any | Any | Any L = See Table 1.
IIIB | T4a, N0–1, M0 | Any | Any | –T4a = Tumor invades the pleura, pericardium, azygos vein, diaphragm, or peritoneum. | Stage IIIB squamous cell carcinoma of the esophagus (2); drawing shows cancer in the esophagus and in the (a) diaphragm, (b) azygos vein, (c) pleura, and (d) membrane (sac) around the heart. Also shown are the airway, lung, aorta, chest wall, heart, and rib.
IIIB | T4a, N0–1, M0 | Any | Any | N0 = No regional lymph node metastasis.
IIIB | T4a, N0–1, M0 | Any | Any | N1 = Metastasis in one or two regional lymph nodes.
IIIB | T4a, N0–1, M0 | Any | Any | M0 = No distant metastasis.
IIIB | T4a, N0–1, M0 | Any | Any | Any G = See Table 1.
IIIB | T4a, N0–1, M0 | Any | Any | Any L = See Table 1.

T = primary tumor; N = regional lymph nodes; M = distant metastasis; G = grade; L = location; p = pathological.

^a^Reprinted with permission from AJCC: Esophageal and esophagogastric junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 185–202.

^b^Location is defined by the position of the epicenter of the tumor in the esophagus.

Table 6. Definitions of pTNM Stages IVA and IVB for Squamous Cell Carcinoma of the Esophagus^a^

Stage | TNM | Grade | Tumor Location^b^ | Description | Illustration
IVA | T4a, N2, M0 | Any | Any | –T4a = Tumor invades the pleura, pericardium, azygos vein, diaphragm, or peritoneum. | Stage IVA squamous cell carcinoma of the esophagus (1); drawing shows cancer in the esophagus and in the (a) diaphragm, (b) azygos vein, (c) pleura, and (d) membrane (sac) around the heart. Also shown is cancer in 3 lymph nodes near the tumor. The airway, lung, aorta, chest wall, heart, and rib are also shown.
IVA | T4a, N2, M0 | Any | Any | N2 = Metastasis in three to six regional lymph nodes.
IVA | T4a, N2, M0 | Any | Any | M0 = No distant metastasis.
IVA | T4a, N2, M0 | Any | Any | Any G = See Table 1.
IVA | T4a, N2, M0 | Any | Any | Any L = See Table 1.
IVA | T4b, N0–2, M0 | Any | Any | –T4b = Tumor invades other adjacent structures, such as the aorta, vertebral body, or airway. | Stage IVA squamous cell carcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | T4b, N0–2, M0 | Any | Any | N0 = No regional lymph node metastasis. | Stage IVA squamous cell carcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | T4b, N0–2, M0 | Any | Any | N1 = Metastasis in one or two regional lymph nodes. | Stage IVA squamous cell carcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | T4b, N0–2, M0 | Any | Any | N2 = Metastasis in three to six regional lymph nodes. | Stage IVA squamous cell carcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | T4b, N0–2, M0 | Any | Any | M0 = No distant metastasis. | Stage IVA squamous cell carcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | T4b, N0–2, M0 | Any | Any | Any G = See Table 1. | Stage IVA squamous cell carcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | T4b, N0–2, M0 | Any | Any | Any L = See Table 1. | Stage IVA squamous cell carcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | Any T, N3, M0 | Any | Any | Any T = See Table 1. | Stage IVA squamous cell carcinoma of the esophagus (3); drawing shows cancer in the esophagus and in 9 lymph nodes near the tumor.
IVA | Any T, N3, M0 | Any | Any | N3 = Metastasis in seven or more regional lymph nodes. | Stage IVA squamous cell carcinoma of the esophagus (3); drawing shows cancer in the esophagus and in 9 lymph nodes near the tumor.
IVA | Any T, N3, M0 | Any | Any | M0 = No distant metastasis. | Stage IVA squamous cell carcinoma of the esophagus (3); drawing shows cancer in the esophagus and in 9 lymph nodes near the tumor.
IVA | Any T, N3, M0 | Any | Any | Any G = See Table 1. | Stage IVA squamous cell carcinoma of the esophagus (3); drawing shows cancer in the esophagus and in 9 lymph nodes near the tumor.
IVA | Any T, N3, M0 | Any | Any | Any L = See Table 1. | Stage IVA squamous cell carcinoma of the esophagus (3); drawing shows cancer in the esophagus and in 9 lymph nodes near the tumor.
IVB | Any T, Any N, M1 | Any | Any | Any T = See Table 1. | Stage IVB squamous cell carcinoma of the esophagus; drawing shows other parts of the body where esophagus cancer may spread, including the lung and liver. An inset shows cancer cells spreading from the esophagus, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
IVB | Any T, Any N, M1 | Any | Any | Any N = See Table 1.
IVB | Any T, Any N, M1 | Any | Any | M1 = Distant metastasis.
IVB | Any T, Any N, M1 | Any | Any | Any G = See Table 1.
IVB | Any T, Any N, M1 | Any | Any | Any L = See Table 1.

T = primary tumor; N = regional lymph nodes; M = distant metastasis; G = grade; L = location; p = pathological.

^a^Reprinted with permission from AJCC: Esophageal and esophagogastric junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 185–202.

^b^Location is defined by the position of the epicenter of the tumor in the esophagus.

##### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

#### Staging for adenocarcinoma of the esophagus

Table 7. Definitions of pTNM Stage 0 for Adenocarcinoma of the Esophagus^a^

Stage | TNM | Grade | Description | Illustration
0 | Tis, N0, M0 | N/A | Tis = High-grade dysplasia, defined as malignant cells confined to the epithelium by the basement membrane. | Stage 0 adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows cancer cells in the inner lining of the esophagus wall. Also shown are the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall. The lymph nodes are also shown.
0 | Tis, N0, M0 | N/A | N0 = No regional lymph node metastasis.
0 | Tis, N0, M0 | N/A | M0 = No distant metastasis.

T = primary tumor; N = regional lymph nodes; M = distant metastasis; G = grade; N/A = not applicable; p = pathological.

^a^Reprinted with permission from AJCC: Esophageal and esophagogastric junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 185–202.

Table 8. Definitions of pTNM Stages IA, IB, and IC for Adenocarcinoma of the Esophagus^a^

Stage | TNM | Grade | Description | Illustration
IA | T1a, N0, M0 | G1 | –T1a = Tumor invades the lamina propria or muscularis mucosae. | Stage IA adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows cancer cells in the mucosa layer and thin muscle layer of the esophagus wall. The cancer cells are grade 1 or the grade is not known. Also shown are the submucosa layer, thick muscle layer, and connective tissue layer of the esophagus wall. The lymph nodes are also shown.
IA | T1a, N0, M0 | G1 | N0 = No regional lymph node metastasis.
IA | T1a, N0, M0 | G1 | M0 = No distant metastasis.
IA | T1a, N0, M0 | G1 | G1 = Well differentiated.
IA | T1a, N0, M0 | GX | –T1a = Tumor invades the lamina propria or muscularis mucosae.
IA | T1a, N0, M0 | GX | N0 = No regional lymph node metastasis.
IA | T1a, N0, M0 | GX | M0 = No distant metastasis.
IA | T1a, N0, M0 | GX | GX = Grade cannot be assessed.
IB | T1a, N0, M0 | G2 | –T1a = Tumor invades the lamina propria or muscularis mucosae. | Stage IB adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The lymph nodes are also shown. The left panel shows grade 2 cancer cells in the mucosa layer and thin muscle layer. The right panel shows cancer cells in the mucosa layer, thin muscle layer, and submucosa layer. The cancer cells are grade 1 or 2 or the grade is not known.
IB | T1a, N0, M0 | G2 | N0 = No regional lymph node metastasis.
IB | T1a, N0, M0 | G2 | M0 = No distant metastasis.
IB | T1a, N0, M0 | G2 | G2 = Moderately differentiated.
IB | T1b, N0, M0 | G1–2 | –T1b = Tumor invades the submucosa.
IB | T1b, N0, M0 | G1–2 | N0 = No regional lymph node metastasis.
IB | T1b, N0, M0 | G1–2 | M0 = No distant metastasis.
IB | T1b, N0, M0 | G1–2 | G1 = Well differentiated.
IB | T1b, N0, M0 | G1–2 | G2 = Moderately differentiated.
IB | T1b, N0, M0 | GX | –T1b = Tumor invades the submucosa.
IB | T1b, N0, M0 | GX | N0 = No regional lymph node metastasis.
IB | T1b, N0, M0 | GX | M0 = No distant metastasis.
IB | T1b, N0, M0 | GX | GX = Grade cannot be assessed.
IC | T1, N0, M0 | G3 | T1 = Tumor invades the lamina propria, muscularis mucosae, or submucosa. | Stage IC adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The lymph nodes are also shown. The left panel shows grade 3 cancer cells in the mucosa layer, thin muscle layer, and submucosa layer. The right panel shows grade 1 or 2 cancer cells in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer.
IC | T1, N0, M0 | G3 | –T1a = Tumor invades the lamina propria or muscularis mucosae.
IC | T1, N0, M0 | G3 | –T1b = Tumor invades the submucosa.
IC | T1, N0, M0 | G3 | N0 = No regional lymph node metastasis.
IC | T1, N0, M0 | G3 | M0 = No distant metastasis.
IC | T1, N0, M0 | G3 | G3 = Poorly differentiated, undifferentiated.
IC | T2, N0, M0 | G1–2 | T2 = Tumor invades the muscularis propria.
IC | T2, N0, M0 | G1–2 | N0 = No regional lymph node metastasis.
IC | T2, N0, M0 | G1–2 | M0 = No distant metastasis.
IC | T2, N0, M0 | G1–2 | G1 = Well differentiated.
IC | T2, N0, M0 | G1–2 | G2 = Moderately differentiated.

T = primary tumor; N = regional lymph nodes; M = distant metastasis; G = grade; p = pathological.

^a^Reprinted with permission from AJCC: Esophageal and esophagogastric junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 185–202.

Table 9. Definitions of pTNM Stages IIA and IIB for Adenocarcinoma of the Esophagus^a^

Stage | TNM | Grade | Description | Illustration
IIA | T2, N0, M0 | G3 | T2 = Tumor invades the muscularis propria. | Stage IIA adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. An inset shows cancer cells in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer of the esophagus wall. The cancer cells are grade 3 or the grade is not known. Also shown is the connective tissue layer of the esophagus wall and the lymph nodes.
IIA | T2, N0, M0 | G3 | N0 = No regional lymph node metastasis.
IIA | T2, N0, M0 | G3 | M0 = No distant metastasis.
IIA | T2, N0, M0 | G3 | G3 = Poorly differentiated, undifferentiated.
IIA | T2, N0, M0 | GX | T2 = Tumor invades the muscularis propria.
IIA | T2, N0, M0 | GX | N0 = No regional lymph node metastasis.
IIA | T2, N0, M0 | GX | M0 = No distant metastasis.
IIA | T2, N0, M0 | GX | GX = Grade cannot be assessed.
IIB | T1, N1, M0 | Any | T1 = Tumor invades the lamina propria, muscularis mucosae, or submucosa. | Stage IIB adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The left panel shows cancer in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The right panel shows cancer in the mucosa layer, thin muscle layer, and submucosa layer and in 1 lymph node near the tumor.
IIB | T1, N1, M0 | Any | –T1a = Tumor invades the lamina propria or muscularis mucosae.
IIB | T1, N1, M0 | Any | –T1b = Tumor invades the submucosa.
IIB | T1, N1, M0 | Any | N1 = Metastasis in one or two regional lymph nodes.
IIB | T1, N1, M0 | Any | M0 = No distant metastasis.
IIB | T1, N1, M0 | Any | Any G = See Table 1.
IIB | T3, N0, M0 | Any | T3 = Tumor invades adventitia.
IIB | T3, N0, M0 | Any | N0 = No regional lymph node metastasis.
IIB | T3, N0, M0 | Any | M0 = No distant metastasis.
IIB | T3, N0, M0 | Any | Any G = See Table 1.

T = primary tumor; N = regional lymph nodes; M = distant metastasis; G = grade; p = pathological.

^a^Reprinted with permission from AJCC: Esophageal and esophagogastric junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 185–202.

Table 10. Definitions of pTNM Stages IIIA and IIIB for Adenocarcinoma of the Esophagus^a^

Stage | TNM | Grade | Description | Illustration
IIIA | T1, N2, M0 | Any | T1 = Tumor invades the lamina propria, muscularis mucosae, or submucosa. | Stage IIIA adenocarcinoma of the esophagus; drawing shows the esophagus and stomach. A two-panel inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The left panel shows cancer in the mucosa layer, thin muscle layer, and submucosa layer and in 3 lymph nodes near the tumor. The right panel shows cancer in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer and in 1 lymph node near the tumor.
IIIA | T1, N2, M0 | Any | –T1a = Tumor invades the lamina propria or muscularis mucosae.
IIIA | T1, N2, M0 | Any | –T1b = Tumor invades the submucosa.
IIIA | T1, N2, M0 | Any | N2 = Metastasis in three to six regional lymph nodes.
IIIA | T1, N2, M0 | Any | M0 = No distant metastasis.
IIIA | T1, N2, M0 | Any | Any G = See Table 1.
IIIA | T2, N1, M0 | Any | T2 = Tumor invades the muscularis propria.
IIIA | T2, N1, M0 | Any | N1 = Metastasis in one or two regional lymph nodes.
IIIA | T2, N1, M0 | Any | M0 = No distant metastasis.
IIIA | T2, N1, M0 | Any | Any G = See Table 1.
IIIB | T2, N2, M0 | Any | T2 = Tumor invades the muscularis propria. | Stage IIIB adenocarcinoma of the esophagus (1); drawing shows the esophagus and stomach. An inset shows the layers of the esophagus wall: the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer. The left panel shows cancer in the mucosa layer, thin muscle layer, submucosa layer, and thick muscle layer and in 3 lymph nodes near the tumor. The right panel shows cancer in the mucosa layer, thin muscle layer, submucosa layer, thick muscle layer, and connective tissue layer and in 4 lymph nodes near the tumor.
IIIB | T2, N2, M0 | Any | N2 = Metastasis in three to six regional lymph nodes.
IIIB | T2, N2, M0 | Any | M0 = No distant metastasis.
IIIB | T2, N2, M0 | Any | Any G = See Table 1.
IIIB | T3, N1–2, M0 | Any | T3 = Tumor invades adventitia.
IIIB | T3, N1–2, M0 | Any | N1 = Metastasis in one or two regional lymph nodes.
IIIB | T3, N1–2, M0 | Any | N2 = Metastasis in three to six regional lymph nodes.
IIIB | T3, N1–2, M0 | Any | M0 = No distant metastasis.
IIIB | T3, N1–2, M0 | Any | Any G = See Table 1.
IIIB | T4a, N0–1, M0 | Any | –T4a = Tumor invades the pleura, pericardium, azygos vein, diaphragm, or peritoneum. | Stage IIIB adenocarcinoma of the esophagus (2); drawing shows cancer in the esophagus and in the (a) diaphragm, (b) azygos vein, (c) pleura, and (d) membrane (sac) around the heart. Also shown are the airway, lung, aorta, chest wall, heart, and rib.
IIIB | T4a, N0–1, M0 | Any | N0 = No regional lymph node metastasis.
IIIB | T4a, N0–1, M0 | Any | N1 = Metastasis in one or two regional lymph nodes.
IIIB | T4a, N0–1, M0 | Any | M0 = No distant metastasis.
IIIB | T4a, N0–1, M0 | Any | Any G = See Table 1.

T = primary tumor; N = regional lymph nodes; M = distant metastasis; G = grade; p = pathological.

^a^Reprinted with permission from AJCC: Esophageal and esophagogastric junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 185–202.

Table 11. Definitions of pTNM Stages IVA and IVB for Adenocarcinoma of the Esophagus^a^

Stage | TNM | Grade | Description | Illustration
IVA | T4a, N2, M0 | Any | –T4a = Tumor invades the pleura, pericardium, azygos vein, diaphragm, or peritoneum. | Stage IVA adenocarcinoma of the esophagus (1); drawing shows cancer in the esophagus and in the (a) diaphragm, (b) azygos vein, (c) pleura, and (d) membrane (sac) around the heart. Also shown is cancer in 3 lymph nodes near the tumor. The airway, lung, aorta, chest wall, heart, and rib are also shown.
IVA | T4a, N2, M0 | Any | N2 = Metastasis in three to six regional lymph nodes.
IVA | T4a, N2, M0 | Any | M0 = No distant metastasis.
IVA | T4a, N2, M0 | Any | Any G = See Table 1.
IVA | T4b, N0–2, M0 | Any | –T4b = Tumor invades other adjacent structures, such as the aorta, vertebral body, or airway. | Stage IVA adenocarcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | T4b, N0–2, M0 | Any | N0 = No regional lymph node metastasis. | Stage IVA adenocarcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | T4b, N0–2, M0 | Any | N1 = Metastasis in one or two regional lymph nodes. | Stage IVA adenocarcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | T4b, N0–2, M0 | Any | N2 = Metastasis in three to six regional lymph nodes. | Stage IVA adenocarcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | T4b, N0–2, M0 | Any | M0 = No distant metastasis. | Stage IVA adenocarcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | T4b, N0–2, M0 | Any | Any G = See Table 1. | Stage IVA adenocarcinoma of the esophagus (2); drawing shows cancer in the esophagus, airway, aorta, and spine.
IVA | Any T, N3, M0 | Any | Any T = See Table 1. | Stage IVA adenocarcinoma of the esophagus (3); drawing shows cancer in the esophagus and in 9 lymph nodes near the tumor.
IVA | Any T, N3, M0 | Any | N3 = Metastasis in seven or more regional lymph nodes. | Stage IVA adenocarcinoma of the esophagus (3); drawing shows cancer in the esophagus and in 9 lymph nodes near the tumor.
IVA | Any T, N3, M0 | Any | M0 = No distant metastasis. | Stage IVA adenocarcinoma of the esophagus (3); drawing shows cancer in the esophagus and in 9 lymph nodes near the tumor.
IVA | Any T, N3, M0 | Any | Any G = See Table 1. | Stage IVA adenocarcinoma of the esophagus (3); drawing shows cancer in the esophagus and in 9 lymph nodes near the tumor.
IVB | Any T, Any N, M1 | Any | Any T = See Table 1. | Stage IVB adenocarcinoma of the esophagus; drawing showing other parts of the body where esophagus cancer may spread, including the lung and liver. An inset shows cancer cells spreading from the esophagus, through the blood and lymph system, to another part of the body where metastatic cancer has formed.
IVB | Any T, Any N, M1 | Any | Any N = See Table 1.
IVB | Any T, Any N, M1 | Any | M1 = Distant metastasis.
IVB | Any T, Any N, M1 | Any | Any G = See Table 1.

T = primary tumor; N = regional lymph nodes; M = distant metastasis; G = grade; p = pathological.

^a^Reprinted with permission from AJCC: Esophageal and esophagogastric junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. New York, NY: Springer, 2017, pp. 185–202.

### References

Ziegler K, Sanft C, Zeitz M, et al.: Evaluation of endosonography in TN staging of oesophageal cancer. Gut 32 (1): 16-20, 1991.1991632 91122668
Tio TL, Coene PP, den Hartog Jager FC, et al.: Preoperative TNM classification of esophageal carcinoma by endosonography. Hepatogastroenterology 37 (4): 376-81, 1990.2210603 91007585
Vazquez-Sequeiros E, Norton ID, Clain JE, et al.: Impact of EUS-guided fine-needle aspiration on lymph node staging in patients with esophageal carcinoma. Gastrointest Endosc 53 (7): 751-7, 2001.11375583 21269141
Bonavina L, Incarbone R, Lattuada E, et al.: Preoperative laparoscopy in management of patients with carcinoma of the esophagus and of the esophagogastric junction. J Surg Oncol 65 (3): 171-4, 1997.9236925 97380126
Sugarbaker DJ, Jaklitsch MT, Liptay MJ: Thoracoscopic staging and surgical therapy for esophageal cancer. Chest 107 (6 Suppl): 218S-223S, 1995.7781397 95300560
Luketich JD, Schauer P, Landreneau R, et al.: Minimally invasive surgical staging is superior to endoscopic ultrasound in detecting lymph node metastases in esophageal cancer. J Thorac Cardiovasc Surg 114 (5): 817-21; discussion 821-3, 1997.9375612 98043247
Krasna MJ, Reed CE, Nedzwiecki D, et al.: CALGB 9380: a prospective trial of the feasibility of thoracoscopy/laparoscopy in staging esophageal cancer. Ann Thorac Surg 71 (4): 1073-9, 2001.11308139 21202339
Flamen P, Lerut A, Van Cutsem E, et al.: Utility of positron emission tomography for the staging of patients with potentially operable esophageal carcinoma. J Clin Oncol 18 (18): 3202-10, 2000.10986052 20442256
Flamen P, Van Cutsem E, Lerut A, et al.: Positron emission tomography for assessment of the response to induction radiochemotherapy in locally advanced oesophageal cancer. Ann Oncol 13 (3): 361-8, 2002.11996465 21991494
Weber WA, Ott K, Becker K, et al.: Prediction of response to preoperative chemotherapy in adenocarcinomas of the esophagogastric junction by metabolic imaging. J Clin Oncol 19 (12): 3058-65, 2001.11408502 21301675
van Westreenen HL, Westerterp M, Bossuyt PM, et al.: Systematic review of the staging performance of 18F-fluorodeoxyglucose positron emission tomography in esophageal cancer. J Clin Oncol 22 (18): 3805-12, 2004.15365078
Meyers BF, Downey RJ, Decker PA, et al.: The utility of positron emission tomography in staging of potentially operable carcinoma of the thoracic esophagus: results of the American College of Surgeons Oncology Group Z0060 trial. J Thorac Cardiovasc Surg 133 (3): 738-45, 2007.17320575
Rice TW, Kelsen D, Blackstone EH, et al.: Esophagus and Esophagogastric Junction. In: Amin MB, Edge SB, Greene FL, et al., eds.: AJCC Cancer Staging Manual. 8th ed. Springer; 2017, pp 185-202.
Korst RJ, Rusch VW, Venkatraman E, et al.: Proposed revision of the staging classification for esophageal cancer. J Thorac Cardiovasc Surg 115 (3): 660-69; discussion 669-70, 1998.9535455 98195132

## Treatment Option Overview for Esophageal Cancer

For patients with minimally invasive resectable esophageal cancer, surgical resection alone offers the potential for cure. In contrast, therapeutic management for patients with locally advanced resectable esophageal cancer has evolved significantly over the last few decades. Because of the risk of distant metastases and local relapse, multimodality therapy with chemotherapy, radiation therapy, and surgical resection has become the standard of care.

The following combinations may provide effective palliation in individual cases:

- Surgery.
- Chemotherapy.
- Radiation therapy.
- Stents, photodynamic therapy, and endoscopic therapy with Nd:YAG laser. Self-expandable metal stent positioning is the recommended method for palliation of dysphagia from esophageal cancer.[1-6]

Table 12. Treatment Options for Esophageal Cancer

Stage (TNM Staging Criteria) | Treatment Options
Stage 0 Esophageal Cancer | Surgery
Stage 0 Esophageal Cancer | Endoscopic resection
Stage I Esophageal Cancer | Chemoradiation therapy followed by surgery
Stage I Esophageal Cancer | Surgery alone
Stage II Esophageal Cancer | Chemoradiation therapy followed by surgery
Stage II Esophageal Cancer | Surgery alone
Stage II Esophageal Cancer | Chemotherapy followed by surgery
Stage II Esophageal Cancer | Definitive chemoradiation therapy
Stage III Esophageal Cancer | Chemoradiation therapy followed by surgery
Stage III Esophageal Cancer | Preoperative chemotherapy followed by surgery
Stage III Esophageal Cancer | Definitive chemoradiation therapy
Stage IV Esophageal Cancer | Chemoradiation therapy followed by surgery (for patients with stage IVA disease)
Stage IV Esophageal Cancer | Chemotherapy, which has provided partial responses for patients with metastatic distal esophageal adenocarcinomas
Stage IV Esophageal Cancer | Adjuvant therapy for patients with completely resected (negative margins) esophageal adenocarcinoma, esophageal squamous cell carcinoma, or gastroesophageal junction cancer who had residual pathological disease after concurrent chemoradiation therapy
Stage IV Esophageal Cancer | Immunotherapy and chemoimmunotherapy for patients with previously untreated, unresectable, advanced or metastatic esophageal squamous cell carcinoma
Stage IV Esophageal Cancer | Immunotherapy and chemoimmunotherapy for patients with previously untreated advanced or metastatic esophageal adenocarcinoma or gastroesophageal junction cancer
Stage IV Esophageal Cancer | Immunotherapy for patients who relapse after one prior line of standard therapy
Stage IV Esophageal Cancer | Nivolumab and chemotherapy for patients with adenocarcinoma
Stage IV Esophageal Cancer | Nd:YAG endoluminal tumor destruction or electrocoagulation
Stage IV Esophageal Cancer | Endoscopic-placed stents to provide palliation of dysphagia
Stage IV Esophageal Cancer | Radiation therapy with or without intraluminal intubation and dilation
Stage IV Esophageal Cancer | Intraluminal brachytherapy to provide palliation of dysphagia
Stage IV Esophageal Cancer | Clinical trials evaluating single-agent or combination chemotherapy
Recurrent Esophageal Cancer | Palliative use of any of the other therapies, including supportive care
Recurrent Esophageal Cancer | Immunotherapy and chemoimmunotherapy for patients with recurrent esophageal squamous cell carcinoma

### Surgery

#### Surgery (Barrett esophagus)

The prevalence of Barrett metaplasia in adenocarcinoma of the esophagus suggests that Barrett esophagus is a premalignant condition. Endoscopic surveillance of patients with Barrett metaplasia may detect adenocarcinoma at an earlier stage that is more amenable to curative resection. Strong consideration should be given to resection in patients with high-grade dysplasia in the setting of Barrett metaplasia.[7]

#### Surgery (esophageal cancer)

The survival rate of patients with esophageal cancer is poor. Surgical treatment of resectable esophageal cancers results in 5-year survival rates of 5% to 30%, with higher survival rates in patients with early-stage cancers.[8] Asymptomatic small tumors confined to the esophageal mucosa or submucosa are detected only by chance. Surgery is the treatment of choice for these small tumors. Once symptoms are present (e.g., dysphagia, in most cases), esophageal cancers have usually invaded the muscularis propria or beyond and may have metastasized to lymph nodes or other organs.

In some patients with partial esophageal obstruction, dysphagia may be relieved by placement of an expandable metallic stent [9] or by radiation therapy if the patient has disseminated disease or is not a candidate for surgery. Alternative methods of relieving dysphagia have been reported, including laser therapy and electrocoagulation to destroy intraluminal tumor.[10-12]

In the presence of complete esophageal obstruction without clinical evidence of systemic metastasis, surgical excision of the tumor with mobilization of the stomach to replace the esophagus has been the traditional means of relieving the dysphagia.

The optimal surgical approach for radical resection of esophageal cancer is not known. One approach advocates transhiatal esophagectomy with anastomosis of the stomach to the cervical esophagus. A second approach advocates abdominal mobilization of the stomach and transthoracic excision of the esophagus with anastomosis of the stomach to the upper thoracic esophagus or the cervical esophagus. One study concluded that transhiatal esophagectomy was associated with lower morbidity than was transthoracic esophagectomy with extended en bloc lymphadenectomy; however, median overall disease-free and quality-adjusted survival did not differ significantly.[13] Similarly, no differences in long-term quality of life (QOL) using validated QOL instruments have been reported.[14] More recently, minimally invasive approaches that offer potential advantages of smaller incisions, decreased intraoperative blood loss, fewer postoperative complications, and shorter hospital stays have emerged. However, the ability to obtain negative surgical margins, the adequacy of lymph node dissection, and long-term outcomes have not been fully established with this approach.[15]

In the United States, the median age of patients who present with esophageal cancer is 68 years.[16] The results of a retrospective review of 505 consecutive patients who were operated on by a single surgical team over 17 years found no difference in the perioperative mortality, median survival, or palliative benefit of esophagectomy on dysphagia when the patients older than 70 years were compared with their younger peers.[17][Level of evidence C1] All of the patients in this series were selected for surgery on the basis of potential operative risk. Age alone does not determine therapy for patients with potentially resectable disease.

### Preoperative Chemotherapy Plus Anti-Human Epidermal Growth Factor Receptor 2 Therapy and/or Immunotherapy

#### Fluorouracil, leucovorin, oxaliplatin, and docetaxel chemotherapy plus trastuzumab and pertuzumab

Evidence (fluorouracil [5-FU], leucovorin, oxaliplatin, and docetaxel [FLOT] chemotherapy plus trastuzumab and pertuzumab):

1. A multicenter phase II/III trial (NCT02581462 (https://www.cancer.gov/clinicaltrials/NCT02581462)) included patients with human epidermal growth factor receptor 2 (HER2)-positive resectable gastric or gastroesophageal junction adenocarcinoma (clinical T2 or larger or clinically node-positive). A total of 81 patients (61 with gastroesophageal cancer, 20 with gastric cancer) were enrolled during the phase II part of the study. Patients were randomly assigned to receive four preoperative and postoperative cycles of either FLOT alone (arm A, n = 41) or FLOT combined with trastuzumab and pertuzumab followed by nine cycles of trastuzumab and pertuzumab (arm B, n = 40). In the phase II part of the study, the primary end point was the rate of pathological complete response. The trial did not transition to phase III. It closed prematurely, after results of the JACOB trial were reported, which demonstrated that adding pertuzumab to trastuzumab and chemotherapy did not significantly improve overall survival (OS) in patients with HER2-positive metastatic gastric or gastroesophageal junction cancer compared with placebo.[18]
  - The pathological complete response rate was significantly improved for patients in arm B at 35%, compared with 12% for patients in arm A (P = .02).[18][Level of evidence B3]
  - The rate of pathological lymph node negativity was higher for patients who received trastuzumab and pertuzumab (39% for arm A vs. 68% for arm B).
  - The R0 resection rate was 90% for patients in arm A and 93% for patients in arm B. Surgical morbidity was also comparable, at 43% for patients in arm A and 44% for patients in arm B.
  - The median disease-free survival (DFS) was 26 months for patients in arm A and not yet reached for patients in arm B (hazard ratio [HR], 0.58; P =.14).
  - The 24-month DFS rates were 54% (95% confidence interval [CI], 38%–71%) in arm A and 70% (95% CI, 55%–85%) in arm B. The 24-month OS rates were 77% (95% CI, 63%–90%) in arm A and 84% (95% CI, 72%–96%) in arm B.
  - More grade 3 or greater adverse events were reported among patients who received trastuzumab and pertuzumab, especially diarrhea (5% of patients in arm A and 41% of patients in arm B) and leukopenia (13% of patients in arm A and 23% of patients in arm B).

### Preoperative Chemoradiation Therapy

On the basis of several randomized trial results, chemoradiation followed by surgery is a treatment option for patients with stages IB, II, III, and IVA esophageal cancer.

Phase III trials have compared preoperative concurrent chemoradiation therapy with surgery alone for patients with esophageal cancer.[19-25][Level of evidence A1] The benefit of neoadjuvant chemoradiation has been controversial because of contradictory results of early randomized studies.[19-22] However, the Chemoradiotherapy for Oesophageal Cancer Followed by Surgery Study (CROSS) has definitively demonstrated a survival benefit for preoperative chemoradiation compared with surgery alone in locally advanced esophageal cancer.[23]

For early-stage tumors, the role of preoperative chemoradiation remains controversial. Although the CROSS study included early-stage patients, the Francophone de Cancérologie Digestive (FFCD) 9901 study (NCT00047112 (https://www.cancer.gov/clinicaltrials/NCT00047112)),[25] which included only early-stage (stage I or II) patients, failed to demonstrate a survival advantage in this group of patients.

Evidence (preoperative chemoradiation therapy):

1. The CROSS study randomly assigned 366 patients with resectable esophageal or junctional cancers to receive either surgery alone or weekly administration of carboplatin (dose titrated to achieve an AUC [area under the curve] of 2 mg/mL/minute) and paclitaxel (50 mg/m^2^ of BSA [body surface area]) and concurrent radiation therapy (41.4 Gy in 23 fractions) administered over 5 weeks. Most patients enrolled in the CROSS trial (75%) had adenocarcinoma.[23,26][Level of evidence A1]
  - With a median follow-up of 84 months, preoperative chemoradiation was found to improve median OS from 24 months in the surgery-alone group to 48.6 months (HR, 0.68; 95% CI, 0.53–0.88; P = .003). Median OS for patients with squamous cell carcinomas was 81.6 months in the preoperative chemoradiation group, compared with 21.1 months in the surgery-alone group (HR, 0.48; 95% CI, 0.28–0.83; log-rank P = .008); for patients with adenocarcinomas, median OS was 43.2 months in the preoperative chemoradiation group, compared with 27.1 months in the surgery-alone group (HR, 0.73; 95% CI, 0.55–0.98; log-rank P = .038).[26]
  - Additionally, preoperative chemoradiation improved the rate of R0 resections (92% vs. 69%; P < .001). R0 is defined as complete resection with no tumor within 1 mm of resection margins.
  - A complete pathological response was achieved in 29% of patients who underwent resection after chemoradiation therapy. A pathological complete response was observed in 23% of patients with adenocarcinoma, compared with 49% of patients with squamous cell carcinoma (P = .008).
  - Postoperative complications and in-hospital mortality were equivalent in both groups. The most common hematologic side effects in the chemoradiation group were leukopenia (6%) and neutropenia (2%). The most common nonhematologic side effects were anorexia (5%) and fatigue (3%).
  - With a median follow-up of 84 months, the 5-year progression-free survival (PFS) rate was 44% in the preoperative chemoradiation group, compared with 27% in the surgery-alone group (HR, 0.61; 95% CI, 0.47–0.78). Preoperative chemoradiation therapy reduced locoregional recurrence from 34% to 14% (P < .001) and peritoneal carcinomatosis from 14% to 4% (P < .001). There was a small but significant effect on hematogenous dissemination in favor of the chemoradiation therapy group (35% vs. 29%; P = .025).[24,26][Level of evidence B1]
2. A multicenter, prospective, randomized trial compared preoperative combined chemotherapy (i.e., cisplatin) and radiation therapy (37 Gy in 3.7-Gy fractions) versus surgery alone in patients with squamous cell carcinoma.[19][Level of evidence A1]
  - The study showed no improvement in OS and a significantly higher postoperative mortality rate (12% vs. 4%) in the combined-modality arm.
3. In patients with adenocarcinoma of the esophagus, a single-institution phase III trial was conducted in patients treated with induction chemoradiation therapy consisting of 5-FU, cisplatin, and 40 Gy (in 2.67-Gy fractions) plus surgery compared with resection alone.[20][Level of evidence A1]
  - The results demonstrated a modest survival benefit of 16 months for combined modality therapy versus 11 months for surgery alone.
4. A subsequent single-institution trial randomly assigned patients (75% with adenocarcinoma) to 5-FU, cisplatin, vinblastine, and radiation therapy (1.5 Gy twice daily to a total of 45 Gy) plus resection versus esophagectomy alone.[21][Level of evidence A1]
  - At a median follow-up of more than 8 years, there was no significant difference between the surgery alone and combined modality therapy with respect to median survival (17.6 months vs. 16.9 months), OS rate (16% vs. 30% at 3 years), or DFS rate (16% vs. 28% at 3 years).
5. An intergroup trial (CALGB-9781 (https://www.cancer.gov/clinicaltrials/NCT00003118) [NCT00003118]) planned to randomly assign 475 patients with resectable squamous cell or adenocarcinoma of the thoracic esophagus to treatment with preoperative chemoradiation therapy (5-FU, cisplatin, and 50.4 Gy) followed by esophagectomy and nodal dissection or surgery alone. The trial was closed as a result of poor patient accrual; however, results from the 56 enrolled patients, with a median follow-up of 6 years, were reported.[22][Level of evidence A1]
  - The median survival was 4.48 years (95% CI; range, 2.4–not estimable) for trimodality therapy versus 1.79 years (95% CI, 1.41–2.59) for surgery alone (P = .002), with a 5-year OS rate of 39% for trimodality therapy (95% CI, 21%–57%) versus 16% for surgery alone (95% CI, 5%–33%).
6. To further evaluate the impact of neoadjuvant chemoradiation therapy for early-stage disease, the FFCD 9901 study randomly assigned 195 patients with stage I or stage II esophageal cancer to receive surgery alone or neoadjuvant chemoradiation therapy (45 Gy in 25 fractions administered with two courses of 5-FU [800 mg/m^2^] and cisplatin [75 mg/m^2^]) followed by surgery.[25][Level of evidence A1]
  - At interim analysis, accrual to the study was stopped early because of futility.
  - With a median follow-up of 94 months, there was no significant improvement in 3-year OS rates with chemoradiation (48% vs. 53%; P = .94); there was a significantly higher postoperative mortality rate of 11.1% versus 3.4% (P = .049).
7. The NRG Oncology/RTOG-1010 (https://www.cancer.gov/clinicaltrials/NCT01196390) trial (NCT01196390) evaluated the addition of trastuzumab to trimodality treatment (paclitaxel plus carboplatin and radiotherapy, followed by surgery) in patients with untreated HER2-overexpressing esophageal adenocarcinoma. This phase III trial entered 606 patients for HER2 assessment. A total of 203 patients with HER2-positive disease were randomly assigned to receive chemoradiation therapy plus trastuzumab (n = 102) or chemoradiation therapy alone (n = 101). The primary end point was DFS. The median duration of follow-up was 2.8 years.[27]
  - The median DFS was 19.6 months (95% CI, 13.5–26.2) for patients who received chemoradiation therapy plus trastuzumab and 14.2 months (10.5–23.0) for patients who received chemoradiation therapy alone (HR, 0.99; 95% CI, 0.71–1.39; log-rank P = .97).[27][Level of evidence B1]
  - Grade 3 treatment-related adverse events occurred in 41 of 95 patients (43%) who received trastuzumab and 52 of 96 patients (54%) of patients who received chemoradiation therapy alone. Grade 4 treatment-related adverse events occurred in 20 patients (21%) who received trastuzumab and 21 patients (22%) who received chemoradiation therapy alone.
  - There were five treatment-related deaths in the trastuzumab group (bronchopleural fistula, esophageal anastomotic leak, lung infection, sudden death, and death not otherwise specified), and three deaths in the chemoradiation therapy group (two multiorgan failure and one sepsis).
  In conclusion, this trial confirmed that trastuzumab does not have a role in the preoperative treatment of HER2-positive esophageal or gastroesophageal cancer, either with chemotherapy alone or with chemoradiation therapy.

### Preoperative Chemotherapy

The effects of preoperative chemotherapy are being evaluated in randomized trials. Several studies have demonstrated a survival benefit with preoperative chemotherapy compared with surgery alone.[28-30] However, one large randomized study failed to confirm a survival benefit with preoperative chemotherapy.[31] Compared with preoperative chemotherapy alone, preoperative chemoradiation therapy improves pathological response and may improve outcomes.[32]

Evidence (preoperative chemotherapy):

1. An intergroup trial (NCT00525785 (https://www.cancer.gov/clinicaltrials/NCT00525785)) randomly assigned 440 patients with local and operable esophageal cancer of any cell type to three cycles of preoperative 5-FU and cisplatin followed by surgery and two additional cycles of chemotherapy versus surgery alone.[31][Level of evidence A1]
  - After a median follow-up of 55 months, there were no significant differences in median survival between the chemotherapy-plus-surgery group (14.9 months) and the surgery-alone group (16.1 months). The median 2-year survival rate was 35% in the chemotherapy-plus-surgery group and 37% in the surgery-alone group.
  - The addition of chemotherapy did not increase the morbidity associated with surgery.
2. The Medical Research Council Oesophageal Cancer Working Party randomly assigned 802 patients with resectable esophageal cancer, also of any cell type, to two cycles of preoperative 5-FU and cisplatin followed by surgery versus surgery alone.[28][Level of evidence A1]
  - At a median follow-up of 37 months, median survival was significantly improved in the preoperative chemotherapy arm (16.8 months vs. 13.3 months with surgery alone; 95% CI), as was the 2-year OS rate (43% in the preoperative chemotherapy arm and 34% in the surgery-alone arm; 95% CI).
  The interpretation of the results from the intergroup and preoperative chemotherapy trials is challenging because T or N staging was not reported, and prerandomization and radiation could be offered at the discretion of the treating oncologist.
3. The Japanese Clinical Oncology Group randomly assigned 330 patients with clinical stage II or III, excluding T4, squamous cell carcinomas to receive either two cycles of preoperative cisplatin and 5-FU followed by surgery or surgery followed by postoperative chemotherapy of the same regimen. A planned interim analysis was conducted after patient accrual. Although the primary end point of PFS was not met, there was a significant benefit in OS among patients treated with preoperative chemotherapy (P = .01). As a result of these findings, the Data and Safety Monitoring Committee recommended early closure of the study.[29][Level of evidence A3]
  - With a median follow-up of 61 months, the 5-year OS rate was 55% among patients treated with preoperative chemotherapy, compared with 43% among patients treated with postoperative chemotherapy (P = .04). However, there was no significant difference between groups with respect to PFS (5-year PFS rate, 39% vs. 44%; P = .22).
  - Additionally, there were no significant differences between the two groups with respect to postoperative complications or treatment-related toxicities.
4. The Fédération Nationale des Centres de Lutte contre le Cancer and the FFCD randomly assigned 224 patients with resectable adenocarcinoma of the lower esophagus, gastroesophageal junction, or stomach to receive either perioperative chemotherapy and surgery (n = 113) or surgery alone (n = 111). Chemotherapy consisted of two or three preoperative cycles of intravenous (IV) cisplatin (100 mg/m^2^) on day 1 and continuous IV infusion of 5-FU (800 mg/m^2^) for 5 consecutive days (day 1–5) every 28 days, and three or four postoperative cycles of the same regimen.[30][Level of evidence A1]
  - Perioperative chemotherapy was associated with an improved 5-year OS rate (38% vs. 24%; HR, 0.69; P = .02).
  - Grade 3 and 4 toxicity occurred in 38% of patients treated with perioperative chemotherapy, but there was no increase in postoperative morbidity.
5. The Preoperative Chemotherapy or Radiochemotherapy in Esophago-gastric Adenocarcinoma Trial (POET) sought to evaluate the additional benefit of radiation therapy to preoperative chemotherapy. Patients were randomly assigned to receive either induction chemotherapy (15 weeks) followed by surgery or chemotherapy (12 weeks) followed by chemoradiation therapy (3 weeks) and surgery.[32][Level of evidence A1]
  - The study was closed early because of poor accrual. In total, 126 patients were randomly assigned.
  - Preoperative radiation therapy yielded 3-year survival rates of 27% to 47% (log-rank P = .07). The postoperative mortality rate was nonsignificantly increased in the chemoradiation therapy group (10.2% vs. 3.8%; P = .26).

### Perioperative Chemotherapy

1. A trial that included patients with resectable adenocarcinoma of the stomach, esophagogastric junction, or lower esophagus randomly assigned 250 patients to receive perioperative chemotherapy and surgery and 253 patients to receive surgery alone. Chemotherapy consisted of three preoperative and three postoperative cycles of IV epirubicin (50 mg/m^2^) and cisplatin (60 mg/m^2^) on day 1, and a continuous IV infusion of 5-FU (200 mg/m^2^ per day) for 21 days. The primary end point was OS.[33]
  - After a median follow-up of 4 years, 149 patients in the perioperative chemotherapy group and 170 patients in the surgery-alone group had died.
  - Compared with the surgery-alone group, the perioperative chemotherapy group had a higher likelihood of OS (HR_death_, 0.75; 95% CI, 0.60–0.93; P = .009). The 5-year survival rate was 36.3% in the perioperative chemotherapy group (95% CI, 29.5%–43.0%) and 23% (95% CI, 16.6%–29.4%) in the surgery-alone group.[33][Level of evidence A1]
  - The PFS rate was also improved in the perioperative chemotherapy group (HR_progression_, 0.66; 95% CI, 0.53–0.81; P < .001) compared with the surgery-alone group.
  - The rate of postoperative complications was similar in the two groups; 46% in the perioperative chemotherapy group and 45% in the surgery-alone group. The number of deaths within 30 days after surgery was also similar between the two groups.
2. An open-label, randomized, phase II/III trial compared the efficacy and safety of the docetaxel-based triplet FLOT regimen with the combination of epirubicin and cisplatin plus either 5-FU given as a continuous infusion or capecitabine given orally. The trial included 716 patients with adenocarcinoma in clinical stage cT2 or higher, node-positive stage (cN+), or both, or resectable tumors with no evidence of distant metastases. Patients were randomly assigned to receive either: (1) ECF/ECX (three preoperative and three postoperative 3-week cycles of epirubicin [50 mg/m^2^] and cisplatin [60 mg/m^2^] on day 1 plus either 5-FU [200 mg/m^2^] given as a continuous infusion or capecitabine [1,250 mg/m^2^] orally on days 1 to 21), or (2) FLOT (four preoperative and four postoperative 2-week cycles of docetaxel [50 mg/m^2^], oxaliplatin [85 mg/m^2^], leucovorin [200 mg/m^2^], and 5-FU [2,600 mg/m^2^] as a 24-hour infusion on day 1). The primary end point of the trial was OS (superiority) in the intention-to-treat population.[34]
  - OS was longer in the FLOT group than the ECF/ECX group (HR, 0.77; 95% CI, 0.63–0.94). The median OS was 50 months in the FLOT group (38.33–not reached) and 35 months in the ECF/ECX group (27.35–46.26).[34][Level of evidence A1]
  - The number of patients with related serious adverse events (including those occurring during a hospital stay for surgery) was similar between the two groups: 96 patients (27%) in the ECF/ECX group and 97 patients (27%) in the FLOT group.
  - The number of deaths due to toxicity (two [<1%]) was similar in both groups. Hospitalization for toxicity occurred in 94 patients (26%) in the ECF/ECX group and 89 patients (25%) in the FLOT group.
3. The ESOPEC (https://www.cancer.gov/clinicaltrials/NCT02509286) trial (NCT02509286) compared (1) perioperative FLOT (four 2-week cycles of chemotherapy before surgery and four 2-week cycles of chemotherapy after surgery) and surgery with (2) neoadjuvant chemoradiation therapy with the CROSS regimen (41.4 Gy of radiation therapy plus carboplatin and docetaxel) followed by surgery. The trial enrolled 438 patients with clinical (c)T1, cN+, cM0 or cT2–4a, any cN, cM0 resectable esophageal adenocarcinoma. Patients were assigned to the FLOT group (n = 221) or the CROSS group (n = 217). The primary end point was OS.[35]
  - With a median follow-up of 55 months, the 3-year OS rate was 57.4% (95% CI, 50.1%–64.0%) in the FLOT group and 50.7% (95% CI, 43.5%–57.5%) in the CROSS group (HR_death_, 0.70; 95% CI, 0.53–0.92; P = .01). The median OS was 66 months (95% CI, 36–not estimable) in the FLOT group and 37 months (95% CI, 28–43) in the CROSS group.[35][Level of evidence A1]
  - The 3-year PFS rate was 51.6% (95% CI, 44.3%–58.4%) in the FLOT group and 35.0% (95% CI, 28.4%–41.7%) in the CROSS group (HR_disease progression or death_, 0.66; 95% CI, 0.51–0.85).
  - Neoadjuvant treatment was given to 403 patients: 207 patients in the FLOT group and 196 patients in the CROSS group. In the FLOT group 193 patients (89%) received four full cycles of chemotherapy before surgery, and 118 patients (53%) received four full cycles of chemotherapy after surgery. In the CROSS group, 147 patients (68%) received five full cycles of chemotherapy.
  - Surgery was performed in 374 patients: 192 patients in the FLOT group and 179 patients in the CROSS group. R0 resection occurred in 182 of 193 patients (94.3%) in the FLOT group and in 172 of 181 patients (95.0%) in the CROSS group.
  - Pathological complete response after surgery, defined as a pathological stage of ypT0 ypN0 (no residual invasive cancer in the resected primary tumor and lymph nodes), was seen in 32 of 192 patients (16.7%) in the FLOT group and 18 of 179 patients (10.1%) in the CROSS group.
  - At 90 days after surgery, 3.1% of patients in the FLOT group and 5.6% of patients in the CROSS group had died.
  - The study noted grade 3 or higher adverse events that occurred in 5% or more of patients. In the FLOT group, those adverse effects included neutropenia (19.8%), diarrhea (6.8%), leukopenia (6.3%), and pneumonia (5.8%). In the CROSS group, those adverse effects included leukopenia (9.7%) and pneumonia (9.2%).
  In the ESOPEC trial, patients randomly assigned to the CROSS arm did not receive 1 year of adjuvant nivolumab. In the CheckMate 577 trial, 1 year of adjuvant nivolumab improved DFS when compared with placebo in patients who had resected specimens that did not show pathological complete responses. However, OS data from CheckMate 577 have not been published.

### Definitive Chemoradiation Therapy

For patients who are deemed either medically inoperable or have tumors that are unresectable, the efficacy of definitive chemoradiation has been established in numerous randomized controlled trials.[36,37] For patients with squamous cell carcinomas of the esophagus, definitive chemoradiation may offer equivalent outcomes, compared with preoperative chemoradiation followed by surgical resection.[38,39]

Evidence (definitive chemoradiation):

1. A Radiation Therapy Oncology Group trial (RTOG-8501) randomly assigned patients to receive radiation therapy alone (64 Gy in 32 fractions) or chemoradiation (50 Gy in 25 fractions) with concurrent cisplatin (75 mg/m^2^) and continuous-infusion 5-FU (1,000 mg/m^2^ on days 1 to 4 in weeks 1 and 5 followed by two additional cycles of chemotherapy administered 3 weeks apart).[36][Level of evidence A1]
  - There was an improvement in the 5-year survival rate for the combined modality group (27% vs. 0%).
  - An 8-year follow-up of this trial demonstrated an OS rate of 22% for patients who received chemoradiation therapy.
2. Intergroup-0123 (RTOG-9405 (https://www.cancer.gov/clinicaltrials/NCT00002631) [NCT00002631]) was conducted in an attempt to improve upon the results of RTOG-8501. Intergroup-0123 randomly assigned 236 patients with localized esophageal tumors to undergo chemoradiation with high-dose radiation therapy (64.8 Gy) and four monthly cycles of 5-FU and cisplatin versus conventional-dose radiation therapy (50.4 Gy) and the same chemotherapy schedule.[37][Level of evidence A1]
  - Although originally designed to accrue 298 patients, this trial was closed in 1999 after a planned interim analysis showed that it was statistically unlikely that there would be any advantage to using high-dose radiation.
  - At a 2-year median follow-up, no statistically significant differences in median survival were observed between the high-dose and conventional-dose radiation therapy arms (13 months vs. 18 months), 2-year survival rates (31% vs. 40%), or local and regional failure rates (56% vs. 52%).
  - There was a higher treatment mortality rate in the higher-dose arm (9% vs. 2%). However, 7 of 11 deaths in the high-dose arm occurred in patients who had received 50.4 Gy or less.
3. An Eastern Cooperative Oncology Group trial (EST-1282) evaluated 135 patients.[40][Level of evidence A1]
  - This trial showed that chemotherapy plus radiation therapy provided a better 2-year survival rate than did radiation therapy alone, similar to results from the intergroup trial.
4. The PRODIGE5/ACCORD17 (https://www.cancer.gov/clinicaltrials/NCT00861094) trial (NCTE) compared the efficacy and safety of oxaliplatin, 5-FU, and leucovorin calcium (FOLFOX) versus 5-FU and cisplatin as the chemotherapy backbone among patients treated with definitive chemoradiation for localized esophageal cancer. In this multicenter, randomized, phase II and III trial, 267 patients were randomly assigned to receive either six cycles of FOLFOX (three cycles concomitant with radiation therapy), oxaliplatin (85 mg/m^2^), leucovorin (200 mg/m^2^), bolus 5-FU (400 mg/m^2^), and infusion 5-FU (1,600 mg/m^2^ over 46 hours) or four cycles of 5-FU (1,000 mg/m^2^ for 4 days) and cisplatin (75 mg/m^2^ on day 1). All patients received radiation therapy (50 Gy in 25 fractions).[41][Level of evidence B1]
  - With a median follow-up of 25.3 months, there was no significant difference in PFS (9.7 months with FOLFOX vs. 9.4 months with 5-FU and cisplatin; P = .64).
  - There was one death caused by toxicity in the FOLFOX group versus six deaths in the 5-FU and cisplatin arm (P = .066).
  - There were no significant differences in grade 3 or 4 adverse events between treatment groups. Among toxicities of all grades, paresthesia, sensory neuropathy, and increases in aspartate transaminase and alanine transaminase were more common in the FOLFOX group; increases in serum creatinine, mucositis, and alopecia were more common in the 5-FU and cisplatin group.
5. A phase III German trial also compared induction chemotherapy (three courses of bolus 5-FU, leucovorin, etoposide, and cisplatin) followed by chemoradiation therapy (cisplatin, etoposide, and 40 Gy) followed by surgery (arm A), or the same induction chemotherapy followed by chemoradiation therapy (at least 65 Gy) without surgery (arm B) for patients with T3 or T4 squamous cell carcinoma of the esophagus. OS was the primary outcome.[38][Level of evidence A1]
  - The analysis of 172 eligible randomly assigned patients showed that OS rates at 2 years were not statistically significantly different between the two treatment groups (arm A, 39.9%; 95% CI, 29.4%–50.4%; arm B, 35.4%; 95% CI, 25.2%–45.6%; log-rank test for equivalence with 0.15, P < .007).
  - The local 2-year PFS rate was higher in the surgery group (64.3%; 95% CI, 52.1%–76.5%) than in the chemoradiation therapy group (40.7%; 95% CI, 28.9%–52.5%; HR for arm B vs. arm A, 2.1; 95% CI, 1.3–3.5; P < .003).
  - The treatment-related mortality rate was higher in the surgery group (12.8%) than in the chemoradiation therapy group (3.5%) (P < .03).
6. FFCD 9102 (https://www.cancer.gov/clinicaltrials/NCT00416858) (NCTE) randomly assigned 259 patients with T3N0–1M0 thoracic esophageal cancer to receive either two cycles of 5-FU and cisplatin (days 1–5 and 22–26) and either conventional radiation therapy (46 Gy in 4.5 weeks) or split course (15 Gy, days 1–5 and 22–26). Patients with response were then randomly assigned to receive either surgical resection (arm A) or continuation of chemoradiation (arm B: three cycles of 5-FU plus cisplatin and either conventional 20 Gy or split-course 15 Gy radiation therapy).[39][Level of evidence A1]
  - Of the 259 randomly assigned patients, 230 (89%) had squamous cell carcinoma, and 29 patients (11%) had adenocarcinomas.
  - The 2-year OS rate was 34% in patients randomly assigned to receive surgery versus 40% in patients randomly assigned to receive definitive chemoradiation (HR, 0.90; P = .44). Median survival was 17.7 months for surgery and 19.3 months for definitive chemoradiation.
  - The 3-month mortality rate was 9.3% in the surgery arm, compared with 0.8% in the chemoradiation arm (P = .002).

### Adjuvant Therapy

Evidence (adjuvant therapy):

1. A global, randomized, double-blind, placebo-controlled, phase III trial evaluated a checkpoint inhibitor as adjuvant therapy in 794 patients with esophageal or gastroesophageal junction cancer. Adults with a performance status of 0 or 1 and R0 stage II or III disease who had received neoadjuvant chemoradiation therapy and had residual pathological disease were included. Patients were randomly assigned in a 2:1 ratio to receive either nivolumab (240 mg every 2 weeks for 16 weeks) followed by nivolumab (480 mg every 4 weeks) (532 patients) or matching placebo (262 patients). Patients were enrolled regardless of programmed death-ligand 1 (PD-L1) expression. The maximum duration of the trial intervention period was 1 year. The primary end point was DFS. The median follow-up was 24.4 months.[42][Level of evidence B1]
  - The median DFS was 22.4 months (95% CI, 16.6–34.0) among patients who received nivolumab, compared with 11.0 months (95% CI, 8.3–14.3) among patients who received placebo. The HR_disease recurrence or death_ was 0.69 (96.4% CI, 0.56–0.86; P < .001).
  - Median DFS was evaluated across a prespecified subgroup according to histological type. Among patients with adenocarcinoma, the median DFS was 19.4 months in the 376 patients who received nivolumab (95% CI, 15.9–29.4), compared with 11.1 months in the 187 patients who received the placebo (95% CI, 8.3–16.8); the HR_disease recurrence or death_ was 0.75 (95% CI, 0.59–0.96). Among patients with squamous cell carcinoma, the median DFS was 29.7 months (95% CI, 14.4 to not estimable) in the 155 patients who received nivolumab, compared with 11 months (95% CI, 7.6–17.8) in the 75 patients who received the placebo; the HR_disease recurrence or death_ was 0.61 (95% CI, 0.42–0.88).
  - HRs for disease recurrence or death were remarkably close between the 570 patients whose tumors expressed less than 1% of PD-L1 (HR, 0.73; 95% CI, 0.57–0.92) and the 129 patients whose tumors expressed 1% or more of PD-L1 (HR, 0.75; 95% CI, 0.45–1.24).
  - Grade 3 or 4 adverse events of any cause occurred in 183 of 532 patients (34%) in the nivolumab group and 84 of 260 patients (32%) in the placebo group, and serious adverse events of any grade occurred in 30% of the patients in each group (nivolumab: 158 of 532; placebo: 78 of 260). Adverse events that were considered by the investigators to be related to the trial regimen were more common with nivolumab than with placebo, including grade 3 or 4 events (nivolumab: 71 of 532 patients [13%]; placebo: 15 of 260 patients [6%]) and events leading to discontinuation of therapy (nivolumab: 48 of 532 patients [9%]; placebo: 8 of 260 patients [3%]).
  - OS data have not been reported for this study.

Given the positive results for the use of nivolumab after chemoradiation therapy and surgery in patients with esophageal cancer, an ongoing study will determine whether the adjuvant use of checkpoint inhibitor therapy improves outcomes in patients undergoing definitive chemoradiation therapy without surgery (KEYNOTE-975 (https://www.cancer.gov/clinicaltrials/NCT04210115) [NCT04210115]).

### Immunotherapy and Chemoimmunotherapy

#### Immunotherapy and chemoimmunotherapy for patients with squamous cell carcinoma

Phase III randomized trials have compared chemotherapy with chemoimmunotherapy as first-line treatment for patients with advanced squamous cell carcinoma.[43-45]

Evidence (immunotherapy and chemoimmunotherapy for patients with squamous cell carcinoma):

1. In the CheckMate 648 (https://www.cancer.gov/clinicaltrials/NCT03143153) trial (NCT03143153), 970 adults with previously untreated, unresectable advanced, recurrent, or metastatic squamous cell carcinoma were enrolled, regardless of tumor cell PD-L1 expression. Patients were randomly assigned to receive either nivolumab (240 mg every 2 weeks) plus chemotherapy with 5-FU and cisplatin (every 4 weeks), nivolumab (3 mg/kg every 2 weeks) plus ipilimumab (1 mg/kg every 6 weeks), or chemotherapy alone. Primary end points for all groups were OS and PFS per blinded independent central review in patients with tumor cell PD-L1 expression of 1% or more (observed in 49% of patients). Further analyses included all patients regardless of PD-L1 status.[43]
  - In patients with PD-L1-positive disease, the median OS was 15.4 months for patients who received nivolumab plus chemotherapy (95% CI, 11.9–19.5; n = 158), 13.7 months for patients who received nivolumab plus ipilimumab (95% CI, 11.2–17.0; n = 158), and 9.1 months for patients who received chemotherapy alone (95% CI, 7.7–10.0; n = 157). The corresponding HR (vs. chemotherapy) was 0.54 (99.5% CI, 0.37–0.8; P < .0001) for patients who received nivolumab plus chemotherapy and 0.64 (98.6% CI, 0.46–0.9; P < .001) for patients who received nivolumab plus ipilimumab.[43][Level of evidence A1]
  - A statistically significant improvement in median OS, compared with chemotherapy, was also observed in all randomized patients, irrespective of PD-L1 status. Median OS was 13.2 months for patients who received nivolumab plus chemotherapy (95% CI, 11.1–15.7; n = 321), 12.8 months for patients who received nivolumab plus ipilimumab (95% CI, 11.3–15.5; n = 325), and 10.7 months for patients who received chemotherapy alone (95% CI, 9.4–11.9; n = 324). The corresponding HR (vs. chemotherapy) was 0.74 (99.1% CI, 0.58–0.96; P = .0021) for patients who received nivolumab plus chemotherapy and 0.78 (98.2% CI, 0.62–0.98; P = .011) for patients who received nivolumab plus ipilimumab.[43][Level of evidence A1]
  - However, among patients whose tumors expressed less than 1% of PD-L1, OS was not significantly changed by the addition of nivolumab to chemotherapy (n = 329; median OS, 12.2 months with chemotherapy and 12 months with nivolumab plus chemotherapy) or by the combination of nivolumab with ipilimumab (n = 330; median OS, 12.2 months with chemotherapy and 12 months with nivolumab plus ipilimumab).
  - Grade 3 or higher adverse events occurred in 147 patients (47%) who received nivolumab plus chemotherapy, 102 patients (32%) who received nivolumab plus ipilimumab, and 108 patients (36%) who received chemotherapy alone. No new safety signals were observed.
2. The results of ESCORT-1st (https://www.cancer.gov/clinicaltrials/NCT03691090) (NCT03691090), a randomized, double-blind, multicenter, placebo-controlled trial conducted in China, corroborated the positive impact of checkpoint inhibitors combined with first-line chemotherapy on patient survival. In this trial, 596 patients with previously untreated locally advanced or metastatic esophageal squamous cell cancer were randomly assigned (1:1) to receive either the humanized anti-PD-1 monoclonal antibody camrelizumab (200 mg; n = 298) or placebo (n = 298). Patients in both groups also received up to 6 cycles of paclitaxel (175 mg/m^2^) and cisplatin (75 mg/m^2^). All drugs were given IV every 3 weeks. Co-primary end points were OS and independent review committee (IRC)-assessed PFS.[44]
  - With a median follow-up of 10.8 months, patients who received camrelizumab plus chemotherapy had significantly improved OS compared with patients who received placebo plus chemotherapy (median OS, 15.3 months [95% CI, 12.8–17.3] vs. 12.0 months [11.0–13.3]; HR, 0.70; 95% CI, 0.56–0.88; one-sided P = .0010).
  - Grade 3 or higher treatment-related adverse events occurred in 189 patients (63.4%) in the camrelizumab group and 201 patients (67.7%) in the placebo group. Treatment-related deaths occurred in 9 patients (3.0%) in the camrelizumab group and 11 patients (3.7%) in the placebo group.
  Camrelizumab is only approved for use in China.
3. In KEYNOTE-590 (https://www.cancer.gov/clinicaltrials/NCT03189719) (NCT03189719), a double-blind, placebo-controlled, randomized, phase III trial, 1,020 patients with previously untreated, locally advanced, unresectable, or metastatic esophageal cancer or Siewert type 1 gastroesophageal junction cancer (regardless of PD-L1 status) were screened.[45] A total of 749 patients were randomly assigned (1:1) to receive either pembrolizumab (200 mg) or placebo plus chemotherapy (5-FU at 800 mg/m^2^ on days 1–5 and cisplatin 80 mg/m^2^ on day 1 [for up to 6 cycles]). Treatment was repeated once every 3 weeks for up to 35 cycles. The primary end points were: (1) OS in patients with esophageal squamous cell carcinoma and a PD-L1 combined positive score (CPS) of 10 or more, and (2) OS and PFS in patients with esophageal squamous cell carcinoma, patients with a PD-L1 CPS of 10 or more irrespective of the histology, and all randomized patients. A total of 548 enrolled patients (73%) had squamous cell histology, 286 of whom (52%) had a CPS of 10 or more.
  a. At the first interim analysis (after a median follow-up of 22.6 months), patients who received pembrolizumab plus chemotherapy had superior OS compared with patients who received placebo plus chemotherapy for each of the following subgroups:[45][Level of evidence A1]
    - Patients with esophageal squamous cell carcinoma and a PD-L1 CPS of 10 or more (median OS, 13.9 months vs. 8.8 months; HR, 0.57; 95% CI, 0.43–0.75; P < .0001).
    - Patients with esophageal squamous cell carcinoma (OS, 12.6 months vs. 9.8 months; HR, 0.72; 95% CI, 0.60–0.88; P = .0006).
    - Patients with a PD-L1 CPS of 10 or more (OS, 13.5 months vs. 9.4 months; HR, 0.62; 95% CI, 0.49–0.78; P < .0001).
    - All randomized patients (OS, 12.4 months vs. 9.8 months; HR, 0.73; 95% CI, 0.62–0.86; P < .0001).
  b. The 24-month OS rate in each of the above subgroups was double in the pembrolizumab and chemotherapy group compared with the placebo and chemotherapy group (approximately 30% vs. 15%).
  c. Grade 3 or higher treatment-related adverse events occurred in 266 patients (72%) in the pembrolizumab group and 250 patients (68%) in the placebo group.
  Notably, in an exploratory analysis in patients with a PD-L1 CPS of less than 10, median OS was 10.5 months in the pembrolizumab and chemotherapy group versus 10.6 months in the placebo and chemotherapy group (HR, 0.86; 95% CI, 0.68–1.10).

#### Immunotherapy and chemoimmunotherapy for patients with adenocarcinoma

In 2021, the U.S. Food and Drug Administration approved nivolumab in combination with fluoropyrimidine- and platinum-containing chemotherapy for patients with advanced or metastatic gastric cancer, gastroesophageal junction cancer, and esophageal adenocarcinoma after the publication of the results of the CheckMate-649 trial.[46]

Evidence (immunotherapy and chemoimmunotherapy for patients with adenocarcinoma):

1. In a randomized, open-label, international, phase III study (CheckMate-649 (https://www.cancer.gov/clinicaltrials/NCT02872116) [NCT02872116]), 1,581 patients (including 955 with a PD-L1 CPS ≥5) with HER2-negative gastric, gastroesophageal junction, or esophageal adenocarcinomas were randomly assigned (1:1:1) (1:1 after enrollment in the nivolumab-plus-ipilimumab group was closed). A total of 789 patients (473 with a PD-L1 CPS ≥5) were assigned to receive nivolumab and chemotherapy (nivolumab 360 mg with capecitabine and oxaliplatin every 3 weeks, or nivolumab 240 mg with FOLFOX every 2 weeks). A total of 792 patients (482 with a PD-L1 CPS ≥5) were assigned to receive chemotherapy alone (capecitabine and oxaliplatin every 3 weeks or FOLFOX every 2 weeks). Disease site of origin was as follows: 1,100 patients (70%) had gastric adenocarcinoma, 260 patients (17%) had gastroesophageal junction carcinoma, and 211 patients (13%) had esophageal adenocarcinoma.[46]
  - The median follow-up for OS was 13.1 months (interquartile range [IQR], 6.7–19.1) for the nivolumab-plus-chemotherapy group and 11.1 months (IQR, 5.8–16.1) for the chemotherapy-alone group. Nivolumab plus chemotherapy resulted in improvements in OS (14.4 vs. 11.1 months; HR, 0.71; 98.4% CI, 0.59–0.86; P < .0001) and PFS (HR, 0.68; 98% CI, 0.56–0.81; P < .0001) compared with chemotherapy alone in patients with a PD-L1 CPS of 5 or more (minimum follow-up, 12.1 months).[46][Level of evidence A1]
  - The unstratified HR_OS_ for patients with a PD-L1 CPS of less than 1 who received nivolumab plus chemotherapy versus chemotherapy alone was 0.92 (95% CI, 0.70–1.23). For patients with a PD-L1 CPS of less than 5, the HR was 0.94 (0.78–1.13).
  - Grades 3 and 4 adverse events occurred in 462 patients (59%) in the nivolumab group and in 341 patients (44%) in the chemotherapy-alone group.
  - The 3-year efficacy and safety results (minimum follow-up, 36.2 months for patients with a PD-L1 CPS ≥5) reported that the median OS and PFS were substantially unchanged. The OS rate was 21% in the nivolumab-plus-chemotherapy group and 10% in the chemotherapy-alone group. The PFS rate was 13% in the nivolumab-plus-chemotherapy group and 8% in the chemotherapy-alone group.[47]
2. In KEYNOTE-590 (https://www.cancer.gov/clinicaltrials/NCT03189719) (NCT03189719), patients with esophageal cancer or gastroesophageal junction cancer received either pembrolizumab or placebo plus chemotherapy. A total of 221 patients (27%) had adenocarcinoma histology. For study details, see the Immunotherapy and chemoimmunotherapy for patients with squamous cell carcinoma section.[45]
3. The role of nivolumab in combination with chemotherapy was also assessed in ATTRACTION-4 (https://www.cancer.gov/clinicaltrials/NCT02746796) (NCT02746796), a randomized, multicenter, double-blind, placebo-controlled, phase III trial. The study enrolled patients with previously untreated (except for neoadjuvant or adjuvant chemotherapy completed ≥180 days before recurrence), HER2-negative, unresectable, advanced or recurrent gastric or gastroesophageal junction cancer, regardless of PD-L1 expression. Only 9% of enrolled patients had gastroesophageal junction cancer. Patients were randomly assigned (1:1) to receive chemotherapy every 3 weeks (oxaliplatin 130 mg/m² IV on day 1 plus either oral S-1 40 mg/m² or oral capecitabine 1,000 mg/m², twice daily on days 1–14), in addition to either 360 mg nivolumab IV or placebo. The trial was conducted in Japan, South Korea, and Taiwan, and assigned 724 patients to treatment: 362 patients to the nivolumab-plus-chemotherapy group and 362 to the placebo-plus-chemotherapy group. The primary end points were centrally assessed PFS and OS in the intention-to-treat population.[48]
  - At the time of data cutoff, with a median follow-up of 11.6 months, the median PFS was 10.45 months (95% CI, 8.44–14.75) in the nivolumab-plus-chemotherapy group and 8.34 months (6.97–9.40) in the placebo-plus-chemotherapy group (HR, 0.68; 98.51% CI, 0.51–0.90; P = .0007).[48][Level of evidence B1]
  - At the time of data cutoff, with a median follow-up of 26.6 months, the median OS at the final analysis was 17.45 months (95% CI, 15.67–20.83) in the nivolumab-plus-chemotherapy group and 17.15 months (15.18–19.65) in the placebo-plus-chemotherapy group (HR, 0.90; 95% CI, 0.75–1.08; P = .26).[48][Level of evidence A1]
  - The most common treatment-related grade 3 or 4 adverse events were decreased neutrophil count (observed in 20% of patients in the nivolumab-plus-chemotherapy group vs. 16% of patients in the placebo-plus-chemotherapy group) and decreased platelet count (observed in 9% of patients in both groups).
  - Six treatment-related deaths occurred: three in the nivolumab-plus-chemotherapy group (one each of febrile neutropenia, hepatic failure, and sudden death) and three in the placebo-plus-chemotherapy group (one each of sepsis, hemolytic anemia, and interstitial lung disease).
  - Tumor PD-L1 expression was at least 1% in 16% of patients randomized to the nivolumab arm and 15% of patients randomized to the placebo arm.
  - When the 3-year follow-up data were reported, the median PFS and OS remained substantially unchanged. The PFS rate was 27.4% in the nivolumab-plus-chemotherapy group and 12.3% in the placebo-plus-chemotherapy group. The OS rate was 23.9% in the nivolumab-plus-chemotherapy group and 19.4% in the placebo-plus-chemotherapy group. No new safety signals or major late-onset treatment-related adverse events were observed in patients who received nivolumab plus chemotherapy.[49]
4. The multicenter, randomized, placebo-controlled, double-blind, phase III KEYNOTE-585 (https://www.cancer.gov/clinicaltrials/NCT03221426) trial (NCT03221426) evaluated the role of combination neoadjuvant and adjuvant chemotherapy and immune checkpoint inhibition in patients with locally advanced, resectable gastric or gastroesophageal adenocarcinoma. Patients were randomly assigned (1:1) to receive treatment in the following order:
  a. Neoadjuvant pembrolizumab (200 mg IV) or placebo plus cisplatin-based doublet chemotherapy (main cohort, N = 804) every 3 weeks for three cycles.
  b. Surgery, adjuvant pembrolizumab or placebo, and chemotherapy for three cycles.
  c. Adjuvant pembrolizumab or placebo for 11 cycles.
  A small cohort (n = 203) was instead randomly assigned (1:1) to receive treatment in the following order:
  a. Neoadjuvant pembrolizumab or placebo plus FLOT-based chemotherapy (FLOT cohort) every 2 weeks for four cycles.
  b. Surgery, adjuvant pembrolizumab or placebo, plus FLOT for four cycles.
  c. Adjuvant pembrolizumab or placebo for 11 cycles.
  The primary end points were centrally reviewed pathological complete response, investigator-reviewed event-free survival (EFS), OS in the intention-to-treat population, and safety in all patients who received at least one dose of treatment.[50]
  - In the main cohort of 804 patients, after a median follow-up of 47.7 months, 52 of 402 patients (12.9%; 95% CI, 9.8%–16.6%) who received pembrolizumab had pathological complete responses. In contrast, only 8 of 402 patients (2.0%; 95% CI, 0.9%–3.9%) who received placebo had pathological complete responses (difference 10.9%; 95% CI, 7.5–14.8; P < .00001).[50][Level of evidence B3]
  - The median EFS was longer when patients received pembrolizumab (44.4 months, 95% CI, 33.0–not reached) when compared with placebo (25.3 months, 95% CI, 20.6–33.9) (HR, 0.81; 95% CI, 0.67–0.99; P = .0198). These values did not meet the threshold for statistical significance (P = .0178).
  - The median OS was 60.7 months (95% CI, 51.5–not reached) in the pembrolizumab group and 58.0 months (41.5–not reached) in the placebo group (HR, 0.90; 95% CI, 0.73–1.12; P = .174).
  - Grade 3 or higher adverse events of any cause occurred in 312 of 399 patients (78%) in the pembrolizumab group and 297 of 400 patients (74%) in the placebo group. The most common adverse events in patients who received pembrolizumab versus placebo were nausea (60% vs. 62%), anemia (42% vs. 40%), and decreased appetite (41% vs. 43%).
  In this trial, meeting the primary end point of pathological complete response did not translate to improvement in relevant primary clinical objectives like OS and EFS. Furthermore, no differential activity was demonstrated in the experimental group based on PD-L1 expression, according to CPS (cutoff, 1%). This was the first published trial evaluating the role of checkpoint inhibitors when given perioperatively to patients with operable gastric or gastroesophageal cancer. Therefore, pending EFS and OS results from studies that used durvalumab or toripalimab are imperative for understanding.

#### Immunotherapy for patients who relapse after one prior line of standard therapy

Pembrolizumab or nivolumab can be given to patients with esophageal cancer who were previously treated with a chemotherapy regimen that did not include an immune checkpoint inhibitor. Pembrolizumab is appropriate for patients with squamous or adenocarcinoma histology and a CPS of 10 or more. Nivolumab can be given to patients with squamous or adenosquamous histology, regardless of PD-L1 expression.

Evidence (immunotherapy for patients who relapse after one prior line of standard therapy):

1. The open-label phase II KEYNOTE-181 (https://www.cancer.gov/clinicaltrials/NCT02564263) study (NCT02564263) included 628 patients with advanced or metastatic squamous cell carcinoma (n = 401) or adenocarcinoma (n = 227) of the esophagus that progressed after one prior therapy. Patients were randomly assigned (1:1) to receive either pembrolizumab (200 mg every 3 weeks for up to 2 years) or chemotherapy (investigator’s choice of paclitaxel, docetaxel, or irinotecan). Primary end points were OS in patients with a PD-L1 CPS of 10 or more, OS in patients with squamous cell carcinoma, and OS in all patients (one-sided alpha, 0.9%, 0.8%, and 0.8%, respectively).[51]
  - At final analysis, conducted 16 months after the last patient was randomly assigned, OS was prolonged in patients with a CPS of 10 or more who received pembrolizumab versus chemotherapy (median OS, 9.3 vs. 6.7 months; HR, 0.69; 95% CI, 0.52–0.93; P = .0074).[51][Level of evidence A1]
  - Among patients with squamous cell carcinoma, the median OS was 8.2 months for patients who received pembrolizumab and 7.1 months for patients who received chemotherapy (HR, 0.78; 95% CI, 0.63–0.96; P = .0095). Among all patients, the median OS was 7.1 months for patients who received pembrolizumab and 7.1 months for patients who received chemotherapy (HR, 0.89; 95% CI, 0.75–1.05; P = .0560).
  - Grade 3 to 5 treatment-related adverse events occurred in 18.2% of patients who received pembrolizumab and 40.9% of patients who received chemotherapy.
  - Patients in this study had not received prior immunotherapy.
2. The ATTRACTION-3 (https://www.cancer.gov/clinicaltrials/NCT02569242) study (NCT02569242), a multicenter, randomized, open-label, phase III trial, included 419 patients with squamous or adenosquamous esophageal cancer refractory or intolerant to one previous fluoropyrimidine-based and platinum-based chemotherapy. Patients were randomly assigned (1:1) to receive either nivolumab (240 mg every 2 weeks) (n = 210) or investigator's choice of chemotherapy (weekly paclitaxel or docetaxel every 3 weeks) (n = 209). The primary end point was OS.[52]
  - At a follow-up time of 17.6 months, OS was significantly improved in the nivolumab group compared with the chemotherapy group (median OS, 10.9 months [95% CI, 9.2–13.3] vs. 8.4 months [95% CI, 7.2–9.9]) (HR_death_, 0.77; 95% CI, 0.62–0.96; P = .019).[52][Level of evidence A1]
  - Grade 3 or 4 treatment-related adverse events occurred in 38 of 209 patients (18%) in the nivolumab group and 131 of 208 patients (63%) in the chemotherapy group.
  - The most frequent grade 3 or 4 treatment-related adverse events were anemia (4 patients [2%]) in the nivolumab group and decreased neutrophil count (59 patients [28%]) in the chemotherapy group. Five deaths were treatment-related: two in the nivolumab group (one of interstitial lung disease and one of pneumonitis) and three in the chemotherapy group (one of pneumonia, one of spinal cord abscess, and one of interstitial lung disease).

### Postoperative Radiation Therapy

Two randomized trials have shown no significant OS benefit for postoperative radiation therapy compared with surgery alone.[53,54][Level of evidence A1] All newly diagnosed patients should be considered candidates for therapies and clinical trials comparing various treatment modalities. Information about ongoing clinical trials is available from the NCI website (https://www.cancer.gov/research/participate/clinical-trials).

### Capecitabine and Fluorouracil Dosing

The DPYD gene encodes an enzyme that catabolizes pyrimidines and fluoropyrimidines, like capecitabine and fluorouracil. An estimated 1% to 2% of the population has germline pathogenic variants in DPYD, which lead to reduced DPD protein function and an accumulation of pyrimidines and fluoropyrimidines in the body.[55,56] Patients with the DPYD*2A variant who receive fluoropyrimidines may experience severe, life-threatening toxicities that are sometimes fatal. Many other DPYD variants have been identified, with a range of clinical effects.[55-57] Fluoropyrimidine avoidance or a dose reduction of 50% may be recommended based on the patient's DPYD genotype and number of functioning DPYD alleles.[58-60] DPYD genetic testing costs less than $200, but insurance coverage varies due to a lack of national guidelines.[61] In addition, testing may delay therapy by 2 weeks, which would not be advisable in urgent situations. This controversial issue requires further evaluation.[62]

### References

Baron TH: Expandable metal stents for the treatment of cancerous obstruction of the gastrointestinal tract. N Engl J Med 344 (22): 1681-7, 2001.11386268 21253960
Javle M, Ailawadhi S, Yang GY, et al.: Palliation of malignant dysphagia in esophageal cancer: a literature-based review. J Support Oncol 4 (8): 365-73, 379, 2006.17004508
Doosti-Irani A, Mansournia MA, Rahimi-Foroushani A, et al.: Complications of stent placement in patients with esophageal cancer: A systematic review and network meta-analysis. PLoS One 12 (10): e0184784, 2017.28968416
Fuccio L, Scagliarini M, Frazzoni L, et al.: Development of a prediction model of adverse events after stent placement for esophageal cancer. Gastrointest Endosc 83 (4): 746-52, 2016.26344881
Litle VR, Luketich JD, Christie NA, et al.: Photodynamic therapy as palliation for esophageal cancer: experience in 215 patients. Ann Thorac Surg 76 (5): 1687-92; discussion 1692-3, 2003.14602313
Katsoulis IE, Karoon A, Mylvaganam S, et al.: Endoscopic palliation of malignant dysphagia: a challenging task in inoperable oesophageal cancer. World J Surg Oncol 4: 38, 2006.16820062
Lerut T, Coosemans W, Van Raemdonck D, et al.: Surgical treatment of Barrett's carcinoma. Correlations between morphologic findings and prognosis. J Thorac Cardiovasc Surg 107 (4): 1059-65; discussion 1065-6, 1994.8159027 94210912
Kelsen DP, Bains M, Burt M: Neoadjuvant chemotherapy and surgery of cancer of the esophagus. Semin Surg Oncol 6 (5): 268-73, 1990.2237085 91047473
Saxon RR, Morrison KE, Lakin PC, et al.: Malignant esophageal obstruction and esophagorespiratory fistula: palliation with a polyethylene-covered Z-stent. Radiology 202 (2): 349-54, 1997.9015055 97167366
Campbell WR, Taylor SA, Pierce GE, et al.: Therapeutic alternatives in patients with esophageal cancer. Am J Surg 150 (6): 665-8, 1985.4073357 86074701
Mellow MH, Pinkas H: Endoscopic therapy for esophageal carcinoma with Nd:YAG laser: prospective evaluation of efficacy, complications, and survival. Gastrointest Endosc 30 (6): 334-9, 1984.6210226 85077455
Karlin DA, Fisher RS, Krevsky B: Prolonged survival and effective palliation in patients with squamous cell carcinoma of the esophagus following endoscopic laser therapy. Cancer 59 (11): 1969-72, 1987.2436743 87187040
Hulscher JB, van Sandick JW, de Boer AG, et al.: Extended transthoracic resection compared with limited transhiatal resection for adenocarcinoma of the esophagus. N Engl J Med 347 (21): 1662-9, 2002.12444180
de Boer AG, van Lanschot JJ, van Sandick JW, et al.: Quality of life after transhiatal compared with extended transthoracic resection for adenocarcinoma of the esophagus. J Clin Oncol 22 (20): 4202-8, 2004.15483031
Santillan AA, Farma JM, Meredith KL, et al.: Minimally invasive surgery for esophageal cancer. J Natl Compr Canc Netw 6 (9): 879-84, 2008.18926097
National Cancer Institute: SEER Cancer Stat Facts: Esophageal Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/esoph.html). Last accessed February 7, 2025.
Ellis FH, Williamson WA, Heatley GJ: Cancer of the esophagus and cardia: does age influence treatment selection and surgical outcomes? J Am Coll Surg 187 (4): 345-51, 1998.9783779 98455100
Hofheinz RD, Merx K, Haag GM, et al.: FLOT Versus FLOT/Trastuzumab/Pertuzumab Perioperative Therapy of Human Epidermal Growth Factor Receptor 2-Positive Resectable Esophagogastric Adenocarcinoma: A Randomized Phase II Trial of the AIO EGA Study Group. J Clin Oncol 40 (32): 3750-3761, 2022.35709415
Bosset JF, Gignoux M, Triboulet JP, et al.: Chemoradiotherapy followed by surgery compared with surgery alone in squamous-cell cancer of the esophagus. N Engl J Med 337 (3): 161-7, 1997.9219702 97347216
Walsh TN, Noonan N, Hollywood D, et al.: A comparison of multimodal therapy and surgery for esophageal adenocarcinoma. N Engl J Med 335 (7): 462-7, 1996.8672151 96295909
Urba SG, Orringer MB, Turrisi A, et al.: Randomized trial of preoperative chemoradiation versus surgery alone in patients with locoregional esophageal carcinoma. J Clin Oncol 19 (2): 305-13, 2001.11208820 21126161
Tepper J, Krasna MJ, Niedzwiecki D, et al.: Phase III trial of trimodality therapy with cisplatin, fluorouracil, radiotherapy, and surgery compared with surgery alone for esophageal cancer: CALGB 9781. J Clin Oncol 26 (7): 1086-92, 2008.18309943
van Hagen P, Hulshof MC, van Lanschot JJ, et al.: Preoperative chemoradiotherapy for esophageal or junctional cancer. N Engl J Med 366 (22): 2074-84, 2012.22646630
Oppedijk V, van der Gaast A, van Lanschot JJ, et al.: Patterns of recurrence after surgery alone versus preoperative chemoradiotherapy and surgery in the CROSS trials. J Clin Oncol 32 (5): 385-91, 2014.24419108
Mariette C, Dahan L, Mornex F, et al.: Surgery alone versus chemoradiotherapy followed by surgery for stage I and II esophageal cancer: final analysis of randomized controlled phase III trial FFCD 9901. J Clin Oncol 32 (23): 2416-22, 2014.24982463
Shapiro J, van Lanschot JJ, Hulshof MC, et al.: Neoadjuvant chemoradiotherapy plus surgery versus surgery alone for oesophageal or junctional cancer (CROSS): long-term results of a randomised controlled trial. Lancet Oncol 16 (9): 1090-8, 2015.26254683
Safran HP, Winter K, Ilson DH, et al.: Trastuzumab with trimodality treatment for oesophageal adenocarcinoma with HER2 overexpression (NRG Oncology/RTOG 1010): a multicentre, randomised, phase 3 trial. Lancet Oncol 23 (2): 259-269, 2022.35038433
Medical Research Council Oesophageal Cancer Working Group: Surgical resection with or without preoperative chemotherapy in oesophageal cancer: a randomised controlled trial. Lancet 359 (9319): 1727-33, 2002.12049861 22045677
Ando N, Kato H, Igaki H, et al.: A randomized trial comparing postoperative adjuvant chemotherapy with cisplatin and 5-fluorouracil versus preoperative chemotherapy for localized advanced squamous cell carcinoma of the thoracic esophagus (JCOG9907). Ann Surg Oncol 19 (1): 68-74, 2012.21879261
Ychou M, Boige V, Pignon JP, et al.: Perioperative chemotherapy compared with surgery alone for resectable gastroesophageal adenocarcinoma: an FNCLCC and FFCD multicenter phase III trial. J Clin Oncol 29 (13): 1715-21, 2011.21444866
Kelsen DP, Ginsberg R, Pajak TF, et al.: Chemotherapy followed by surgery compared with surgery alone for localized esophageal cancer. N Engl J Med 339 (27): 1979-84, 1998.9869669 99077400
Stahl M, Walz MK, Stuschke M, et al.: Phase III comparison of preoperative chemotherapy compared with chemoradiotherapy in patients with locally advanced adenocarcinoma of the esophagogastric junction. J Clin Oncol 27 (6): 851-6, 2009.19139439
Cunningham D, Allum WH, Stenning SP, et al.: Perioperative chemotherapy versus surgery alone for resectable gastroesophageal cancer. N Engl J Med 355 (1): 11-20, 2006.16822992
Al-Batran SE, Homann N, Pauligk C, et al.: Perioperative chemotherapy with fluorouracil plus leucovorin, oxaliplatin, and docetaxel versus fluorouracil or capecitabine plus cisplatin and epirubicin for locally advanced, resectable gastric or gastro-oesophageal junction adenocarcinoma (FLOT4): a randomised, phase 2/3 trial. Lancet 393 (10184): 1948-1957, 2019.30982686
Hoeppner J, Brunner T, Schmoor C, et al.: Perioperative Chemotherapy or Preoperative Chemoradiotherapy in Esophageal Cancer. N Engl J Med 392 (4): 323-335, 2025.39842010
Cooper JS, Guo MD, Herskovic A, et al.: Chemoradiotherapy of locally advanced esophageal cancer: long-term follow-up of a prospective randomized trial (RTOG 85-01). Radiation Therapy Oncology Group. JAMA 281 (17): 1623-7, 1999.10235156 99249235
Minsky BD, Pajak TF, Ginsberg RJ, et al.: INT 0123 (Radiation Therapy Oncology Group 94-05) phase III trial of combined-modality therapy for esophageal cancer: high-dose versus standard-dose radiation therapy. J Clin Oncol 20 (5): 1167-74, 2002.11870157 21859397
Stahl M, Stuschke M, Lehmann N, et al.: Chemoradiation with and without surgery in patients with locally advanced squamous cell carcinoma of the esophagus. J Clin Oncol 23 (10): 2310-7, 2005.15800321
Bedenne L, Michel P, Bouché O, et al.: Chemoradiation followed by surgery compared with chemoradiation alone in squamous cancer of the esophagus: FFCD 9102. J Clin Oncol 25 (10): 1160-8, 2007.17401004
Smith TJ, Ryan LM, Douglass HO, et al.: Combined chemoradiotherapy vs. radiotherapy alone for early stage squamous cell carcinoma of the esophagus: a study of the Eastern Cooperative Oncology Group. Int J Radiat Oncol Biol Phys 42 (2): 269-76, 1998.9788404 99002453
Conroy T, Galais MP, Raoul JL, et al.: Definitive chemoradiotherapy with FOLFOX versus fluorouracil and cisplatin in patients with oesophageal cancer (PRODIGE5/ACCORD17): final results of a randomised, phase 2/3 trial. Lancet Oncol 15 (3): 305-14, 2014.24556041
Kelly RJ, Ajani JA, Kuzdzal J, et al.: Adjuvant Nivolumab in Resected Esophageal or Gastroesophageal Junction Cancer. N Engl J Med 384 (13): 1191-1203, 2021.33789008
Doki Y, Ajani JA, Kato K, et al.: Nivolumab Combination Therapy in Advanced Esophageal Squamous-Cell Carcinoma. N Engl J Med 386 (5): 449-462, 2022.35108470
Luo H, Lu J, Bai Y, et al.: Effect of Camrelizumab vs Placebo Added to Chemotherapy on Survival and Progression-Free Survival in Patients With Advanced or Metastatic Esophageal Squamous Cell Carcinoma: The ESCORT-1st Randomized Clinical Trial. JAMA 326 (10): 916-925, 2021.34519801
Sun JM, Shen L, Shah MA, et al.: Pembrolizumab plus chemotherapy versus chemotherapy alone for first-line treatment of advanced oesophageal cancer (KEYNOTE-590): a randomised, placebo-controlled, phase 3 study. Lancet 398 (10302): 759-771, 2021.34454674
Janjigian YY, Shitara K, Moehler M, et al.: First-line nivolumab plus chemotherapy versus chemotherapy alone for advanced gastric, gastro-oesophageal junction, and oesophageal adenocarcinoma (CheckMate 649): a randomised, open-label, phase 3 trial. Lancet 398 (10294): 27-40, 2021.34102137
Janjigian YY, Ajani JA, Moehler M, et al.: First-Line Nivolumab Plus Chemotherapy for Advanced Gastric, Gastroesophageal Junction, and Esophageal Adenocarcinoma: 3-Year Follow-Up of the Phase III CheckMate 649 Trial. J Clin Oncol 42 (17): 2012-2020, 2024.38382001
Kang YK, Chen LT, Ryu MH, et al.: Nivolumab plus chemotherapy versus placebo plus chemotherapy in patients with HER2-negative, untreated, unresectable advanced or recurrent gastric or gastro-oesophageal junction cancer (ATTRACTION-4): a randomised, multicentre, double-blind, placebo-controlled, phase 3 trial. Lancet Oncol 23 (2): 234-247, 2022.35030335
Boku N, Omori T, Shitara K, et al.: Nivolumab plus chemotherapy in patients with HER2-negative, previously untreated, unresectable, advanced, or recurrent gastric/gastroesophageal junction cancer: 3-year follow-up of the ATTRACTION-4 randomized, double-blind, placebo-controlled, phase 3 trial. Gastric Cancer 27 (6): 1287-1301, 2024.39162872
Shitara K, Rha SY, Wyrwicz LS, et al.: Neoadjuvant and adjuvant pembrolizumab plus chemotherapy in locally advanced gastric or gastro-oesophageal cancer (KEYNOTE-585): an interim analysis of the multicentre, double-blind, randomised phase 3 study. Lancet Oncol 25 (2): 212-224, 2024.38134948
Kojima T, Shah MA, Muro K, et al.: Randomized Phase III KEYNOTE-181 Study of Pembrolizumab Versus Chemotherapy in Advanced Esophageal Cancer. J Clin Oncol 38 (35): 4138-4148, 2020.33026938
Kato K, Cho BC, Takahashi M, et al.: Nivolumab versus chemotherapy in patients with advanced oesophageal squamous cell carcinoma refractory or intolerant to previous chemotherapy (ATTRACTION-3): a multicentre, randomised, open-label, phase 3 trial. Lancet Oncol 20 (11): 1506-1517, 2019.31582355
Ténière P, Hay JM, Fingerhut A, et al.: Postoperative radiation therapy does not increase survival after curative resection for squamous cell carcinoma of the middle and lower esophagus as shown by a multicenter controlled trial. French University Association for Surgical Research. Surg Gynecol Obstet 173 (2): 123-30, 1991.1925862 92022908
Fok M, Sham JS, Choy D, et al.: Postoperative radiotherapy for carcinoma of the esophagus: a prospective, randomized controlled study. Surgery 113 (2): 138-47, 1993.8430362 93157897
Sharma BB, Rai K, Blunt H, et al.: Pathogenic DPYD Variants and Treatment-Related Mortality in Patients Receiving Fluoropyrimidine Chemotherapy: A Systematic Review and Meta-Analysis. Oncologist 26 (12): 1008-1016, 2021.34506675
Lam SW, Guchelaar HJ, Boven E: The role of pharmacogenetics in capecitabine efficacy and toxicity. Cancer Treat Rev 50: 9-22, 2016.27569869
Shakeel F, Fang F, Kwon JW, et al.: Patients carrying DPYD variant alleles have increased risk of severe toxicity and related treatment modifications during fluoropyrimidine chemotherapy. Pharmacogenomics 22 (3): 145-155, 2021.33410339
Amstutz U, Henricks LM, Offer SM, et al.: Clinical Pharmacogenetics Implementation Consortium (CPIC) Guideline for Dihydropyrimidine Dehydrogenase Genotype and Fluoropyrimidine Dosing: 2017 Update. Clin Pharmacol Ther 103 (2): 210-216, 2018.29152729
Henricks LM, Lunenburg CATC, de Man FM, et al.: DPYD genotype-guided dose individualisation of fluoropyrimidine therapy in patients with cancer: a prospective safety analysis. Lancet Oncol 19 (11): 1459-1467, 2018.30348537
Lau-Min KS, Varughese LA, Nelson MN, et al.: Preemptive pharmacogenetic testing to guide chemotherapy dosing in patients with gastrointestinal malignancies: a qualitative study of barriers to implementation. BMC Cancer 22 (1): 47, 2022.34996412
Brooks GA, Tapp S, Daly AT, et al.: Cost-effectiveness of DPYD Genotyping Prior to Fluoropyrimidine-based Adjuvant Chemotherapy for Colon Cancer. Clin Colorectal Cancer 21 (3): e189-e195, 2022.35668003
Baker SD, Bates SE, Brooks GA, et al.: DPYD Testing: Time to Put Patient Safety First. J Clin Oncol 41 (15): 2701-2705, 2023.36821823

## Treatment of Stage 0 Esophageal Cancer

### Treatment Options for Stage 0 Esophageal Cancer

Stage 0 squamous cell esophageal cancer is rarely seen in the United States, but surgery has been used. For early-stage minimally invasive esophageal cancer, surgical and endoscopic techniques offer high rates of cure.

1. Surgery.[1,2]
2. Endoscopic resection.[3,4]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Rusch VW, Levine DS, Haggitt R, et al.: The management of high grade dysplasia and early cancer in Barrett's esophagus. A multidisciplinary problem. Cancer 74 (4): 1225-9, 1994.8055442 94332771
Heitmiller RF, Redmond M, Hamilton SR: Barrett's esophagus with high-grade dysplasia. An indication for prophylactic esophagectomy. Ann Surg 224 (1): 66-71, 1996.8678620 96289478
Pech O, Bollschweiler E, Manner H, et al.: Comparison between endoscopic and surgical resection of mucosal esophageal adenocarcinoma in Barrett's esophagus at two high-volume centers. Ann Surg 254 (1): 67-72, 2011.21532466
Prasad GA, Wu TT, Wigle DA, et al.: Endoscopic and surgical treatment of mucosal (T1a) esophageal adenocarcinoma in Barrett's esophagus. Gastroenterology 137 (3): 815-23, 2009.19524578

## Treatment of Stage I Esophageal Cancer

### Treatment Options for Stage I Esophageal Cancer

Treatment options for stage I esophageal cancer include:

1. Chemoradiation therapy followed by surgery.[1-5]
2. Surgery alone.[1,3,6,7]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Bosset JF, Gignoux M, Triboulet JP, et al.: Chemoradiotherapy followed by surgery compared with surgery alone in squamous-cell cancer of the esophagus. N Engl J Med 337 (3): 161-7, 1997.9219702 97347216
Walsh TN, Noonan N, Hollywood D, et al.: A comparison of multimodal therapy and surgery for esophageal adenocarcinoma. N Engl J Med 335 (7): 462-7, 1996.8672151 96295909
Urba SG, Orringer MB, Turrisi A, et al.: Randomized trial of preoperative chemoradiation versus surgery alone in patients with locoregional esophageal carcinoma. J Clin Oncol 19 (2): 305-13, 2001.11208820 21126161
Tepper J, Krasna MJ, Niedzwiecki D, et al.: Phase III trial of trimodality therapy with cisplatin, fluorouracil, radiotherapy, and surgery compared with surgery alone for esophageal cancer: CALGB 9781. J Clin Oncol 26 (7): 1086-92, 2008.18309943
van Hagen P, Hulshof MC, van Lanschot JJ, et al.: Preoperative chemoradiotherapy for esophageal or junctional cancer. N Engl J Med 366 (22): 2074-84, 2012.22646630
Conroy T, Galais MP, Raoul JL, et al.: Definitive chemoradiotherapy with FOLFOX versus fluorouracil and cisplatin in patients with oesophageal cancer (PRODIGE5/ACCORD17): final results of a randomised, phase 2/3 trial. Lancet Oncol 15 (3): 305-14, 2014.24556041
Mariette C, Dahan L, Mornex F, et al.: Surgery alone versus chemoradiotherapy followed by surgery for stage I and II esophageal cancer: final analysis of randomized controlled phase III trial FFCD 9901. J Clin Oncol 32 (23): 2416-22, 2014.24982463

## Treatment of Stage II Esophageal Cancer

### Treatment Options for Stage II Esophageal Cancer

Treatment options for stage II esophageal cancer include:

1. Chemoradiation therapy followed by surgery.[1-3]
2. Surgery alone.[4-7]
3. Chemotherapy followed by surgery.[8-10]
4. Definitive chemoradiation therapy.[11,12]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Walsh TN, Noonan N, Hollywood D, et al.: A comparison of multimodal therapy and surgery for esophageal adenocarcinoma. N Engl J Med 335 (7): 462-7, 1996.8672151 96295909
Tepper J, Krasna MJ, Niedzwiecki D, et al.: Phase III trial of trimodality therapy with cisplatin, fluorouracil, radiotherapy, and surgery compared with surgery alone for esophageal cancer: CALGB 9781. J Clin Oncol 26 (7): 1086-92, 2008.18309943
van Hagen P, Hulshof MC, van Lanschot JJ, et al.: Preoperative chemoradiotherapy for esophageal or junctional cancer. N Engl J Med 366 (22): 2074-84, 2012.22646630
Urba SG, Orringer MB, Turrisi A, et al.: Randomized trial of preoperative chemoradiation versus surgery alone in patients with locoregional esophageal carcinoma. J Clin Oncol 19 (2): 305-13, 2001.11208820 21126161
Bosset JF, Gignoux M, Triboulet JP, et al.: Chemoradiotherapy followed by surgery compared with surgery alone in squamous-cell cancer of the esophagus. N Engl J Med 337 (3): 161-7, 1997.9219702 97347216
Conroy T, Galais MP, Raoul JL, et al.: Definitive chemoradiotherapy with FOLFOX versus fluorouracil and cisplatin in patients with oesophageal cancer (PRODIGE5/ACCORD17): final results of a randomised, phase 2/3 trial. Lancet Oncol 15 (3): 305-14, 2014.24556041
Mariette C, Dahan L, Mornex F, et al.: Surgery alone versus chemoradiotherapy followed by surgery for stage I and II esophageal cancer: final analysis of randomized controlled phase III trial FFCD 9901. J Clin Oncol 32 (23): 2416-22, 2014.24982463
Medical Research Council Oesophageal Cancer Working Group: Surgical resection with or without preoperative chemotherapy in oesophageal cancer: a randomised controlled trial. Lancet 359 (9319): 1727-33, 2002.12049861 22045677
Ando N, Kato H, Igaki H, et al.: A randomized trial comparing postoperative adjuvant chemotherapy with cisplatin and 5-fluorouracil versus preoperative chemotherapy for localized advanced squamous cell carcinoma of the thoracic esophagus (JCOG9907). Ann Surg Oncol 19 (1): 68-74, 2012.21879261
Ychou M, Boige V, Pignon JP, et al.: Perioperative chemotherapy compared with surgery alone for resectable gastroesophageal adenocarcinoma: an FNCLCC and FFCD multicenter phase III trial. J Clin Oncol 29 (13): 1715-21, 2011.21444866
Stahl M, Stuschke M, Lehmann N, et al.: Chemoradiation with and without surgery in patients with locally advanced squamous cell carcinoma of the esophagus. J Clin Oncol 23 (10): 2310-7, 2005.15800321
Bedenne L, Michel P, Bouché O, et al.: Chemoradiation followed by surgery compared with chemoradiation alone in squamous cancer of the esophagus: FFCD 9102. J Clin Oncol 25 (10): 1160-8, 2007.17401004

## Treatment of Stage III Esophageal Cancer

### Treatment Options for Stage III Esophageal Cancer

Treatment options for stage III esophageal cancer include:

1. Chemoradiation therapy followed by surgery.[1-3]
2. Preoperative chemotherapy followed by surgery.[4-6]
3. Definitive chemoradiation therapy.[7-9]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Walsh TN, Noonan N, Hollywood D, et al.: A comparison of multimodal therapy and surgery for esophageal adenocarcinoma. N Engl J Med 335 (7): 462-7, 1996.8672151 96295909
Tepper J, Krasna MJ, Niedzwiecki D, et al.: Phase III trial of trimodality therapy with cisplatin, fluorouracil, radiotherapy, and surgery compared with surgery alone for esophageal cancer: CALGB 9781. J Clin Oncol 26 (7): 1086-92, 2008.18309943
van Hagen P, Hulshof MC, van Lanschot JJ, et al.: Preoperative chemoradiotherapy for esophageal or junctional cancer. N Engl J Med 366 (22): 2074-84, 2012.22646630
Medical Research Council Oesophageal Cancer Working Group: Surgical resection with or without preoperative chemotherapy in oesophageal cancer: a randomised controlled trial. Lancet 359 (9319): 1727-33, 2002.12049861 22045677
Ando N, Kato H, Igaki H, et al.: A randomized trial comparing postoperative adjuvant chemotherapy with cisplatin and 5-fluorouracil versus preoperative chemotherapy for localized advanced squamous cell carcinoma of the thoracic esophagus (JCOG9907). Ann Surg Oncol 19 (1): 68-74, 2012.21879261
Ychou M, Boige V, Pignon JP, et al.: Perioperative chemotherapy compared with surgery alone for resectable gastroesophageal adenocarcinoma: an FNCLCC and FFCD multicenter phase III trial. J Clin Oncol 29 (13): 1715-21, 2011.21444866
Conroy T, Galais MP, Raoul JL, et al.: Definitive chemoradiotherapy with FOLFOX versus fluorouracil and cisplatin in patients with oesophageal cancer (PRODIGE5/ACCORD17): final results of a randomised, phase 2/3 trial. Lancet Oncol 15 (3): 305-14, 2014.24556041
Stahl M, Stuschke M, Lehmann N, et al.: Chemoradiation with and without surgery in patients with locally advanced squamous cell carcinoma of the esophagus. J Clin Oncol 23 (10): 2310-7, 2005.15800321
Bedenne L, Michel P, Bouché O, et al.: Chemoradiation followed by surgery compared with chemoradiation alone in squamous cancer of the esophagus: FFCD 9102. J Clin Oncol 25 (10): 1160-8, 2007.17401004

## Treatment of Stage IV Esophageal Cancer

### Treatment Options for Stage IV Esophageal Cancer

At diagnosis, approximately 50% of patients with esophageal cancer have metastatic disease and are candidates for palliative therapy.[1]

Treatment options for stage IV esophageal cancer include:

1. Chemoradiation therapy followed by surgery (for patients with stage IVA disease).
2. Chemotherapy, which has provided partial responses for patients with metastatic distal esophageal adenocarcinomas.[2-4]
3. Adjuvant therapy for patients with completely resected (negative margins) esophageal adenocarcinoma, esophageal squamous cell carcinoma, or gastroesophageal junction cancer who had residual pathologic disease after concurrent chemoradiation therapy.[5]
4. Immunotherapy and chemoimmunotherapy for patients with previously untreated, unresectable, advanced or metastatic esophageal squamous cell carcinoma.[6-8]
5. Immunotherapy and chemoimmunotherapy for patients with previously untreated advanced or metastatic esophageal adenocarcinoma or gastroesophageal junction cancer.[8-10]
6. Immunotherapy for patients who relapse after one prior line of standard therapy.[11,12]
7. Nivolumab and chemotherapy for patients with adenocarcinoma.[9]
8. Nd:YAG endoluminal tumor destruction or electrocoagulation.[13,14]
9. Endoscopic-placed stents to provide palliation of dysphagia.[15]
10. Radiation therapy with or without intraluminal intubation and dilation.
11. Intraluminal brachytherapy to provide palliation of dysphagia.[16,17]
12. Clinical trials evaluating single-agent or combination chemotherapy.

The treatment of patients with human epidermal growth factor receptor 2 (HER2)-negative, locally advanced, inoperable, recurrent, or metastatic esophageal cancer has improved with the introduction of chemoimmunotherapy as front-line therapy and immunotherapy for patients who relapse following one prior line of chemotherapy. First-line chemoimmunotherapy can now be considered the standard of care for patients with advanced esophageal cancer of squamous or adenocarcinoma histology and programmed death-ligand 1 (PD-L1) expression (although the optimal cutoff still needs to be defined). For more information, see the Immunotherapy and Chemoimmunotherapy section.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Enzinger PC, Ilson DH, Kelsen DP: Chemotherapy in esophageal cancer. Semin Oncol 26 (5 Suppl 15): 12-20, 1999.10566606 20030882
Waters JS, Norman A, Cunningham D, et al.: Long-term survival after epirubicin, cisplatin and fluorouracil for gastric cancer: results of a randomized trial. Br J Cancer 80 (1-2): 269-72, 1999.10390007 99316895
Ross P, Nicolson M, Cunningham D, et al.: Prospective randomized trial comparing mitomycin, cisplatin, and protracted venous-infusion fluorouracil (PVI 5-FU) With epirubicin, cisplatin, and PVI 5-FU in advanced esophagogastric cancer. J Clin Oncol 20 (8): 1996-2004, 2002.11956258 21953223
Taïeb J, Artru P, Baujat B, et al.: Optimisation of 5-fluorouracil (5-FU)/cisplatin combination chemotherapy with a new schedule of hydroxyurea, leucovorin, 5-FU and cisplatin (HLFP regimen) for metastatic oesophageal cancer. Eur J Cancer 38 (5): 661-6, 2002.11916548 21914324
Kelly RJ, Ajani JA, Kuzdzal J, et al.: Adjuvant Nivolumab in Resected Esophageal or Gastroesophageal Junction Cancer. N Engl J Med 384 (13): 1191-1203, 2021.33789008
Doki Y, Ajani JA, Kato K, et al.: Nivolumab Combination Therapy in Advanced Esophageal Squamous-Cell Carcinoma. N Engl J Med 386 (5): 449-462, 2022.35108470
Luo H, Lu J, Bai Y, et al.: Effect of Camrelizumab vs Placebo Added to Chemotherapy on Survival and Progression-Free Survival in Patients With Advanced or Metastatic Esophageal Squamous Cell Carcinoma: The ESCORT-1st Randomized Clinical Trial. JAMA 326 (10): 916-925, 2021.34519801
Sun JM, Shen L, Shah MA, et al.: Pembrolizumab plus chemotherapy versus chemotherapy alone for first-line treatment of advanced oesophageal cancer (KEYNOTE-590): a randomised, placebo-controlled, phase 3 study. Lancet 398 (10302): 759-771, 2021.34454674
Janjigian YY, Shitara K, Moehler M, et al.: First-line nivolumab plus chemotherapy versus chemotherapy alone for advanced gastric, gastro-oesophageal junction, and oesophageal adenocarcinoma (CheckMate 649): a randomised, open-label, phase 3 trial. Lancet 398 (10294): 27-40, 2021.34102137
Kang YK, Chen LT, Ryu MH, et al.: Nivolumab plus chemotherapy versus placebo plus chemotherapy in patients with HER2-negative, untreated, unresectable advanced or recurrent gastric or gastro-oesophageal junction cancer (ATTRACTION-4): a randomised, multicentre, double-blind, placebo-controlled, phase 3 trial. Lancet Oncol 23 (2): 234-247, 2022.35030335
Kojima T, Shah MA, Muro K, et al.: Randomized Phase III KEYNOTE-181 Study of Pembrolizumab Versus Chemotherapy in Advanced Esophageal Cancer. J Clin Oncol 38 (35): 4138-4148, 2020.33026938
Kato K, Cho BC, Takahashi M, et al.: Nivolumab versus chemotherapy in patients with advanced oesophageal squamous cell carcinoma refractory or intolerant to previous chemotherapy (ATTRACTION-3): a multicentre, randomised, open-label, phase 3 trial. Lancet Oncol 20 (11): 1506-1517, 2019.31582355
Javle M, Ailawadhi S, Yang GY, et al.: Palliation of malignant dysphagia in esophageal cancer: a literature-based review. J Support Oncol 4 (8): 365-73, 379, 2006.17004508
Katsoulis IE, Karoon A, Mylvaganam S, et al.: Endoscopic palliation of malignant dysphagia: a challenging task in inoperable oesophageal cancer. World J Surg Oncol 4: 38, 2006.16820062
Baron TH: Expandable metal stents for the treatment of cancerous obstruction of the gastrointestinal tract. N Engl J Med 344 (22): 1681-7, 2001.11386268 21253960
Sur RK, Levin CV, Donde B, et al.: Prospective randomized trial of HDR brachytherapy as a sole modality in palliation of advanced esophageal carcinoma--an International Atomic Energy Agency study. Int J Radiat Oncol Biol Phys 53 (1): 127-33, 2002.12007950 22003905
Gaspar LE, Nag S, Herskovic A, et al.: American Brachytherapy Society (ABS) consensus guidelines for brachytherapy of esophageal cancer. Clinical Research Committee, American Brachytherapy Society, Philadelphia, PA. Int J Radiat Oncol Biol Phys 38 (1): 127-32, 1997.9212013 97355532

## Treatment of Recurrent Esophageal Cancer

### Treatment Options for Recurrent Esophageal Cancer

Palliation presents difficult problems for all patients with recurrent esophageal cancer. All patients should be considered candidates for clinical trials as outlined in the Treatment Option Overview for Esophageal Cancer section of this summary.

Treatment options for recurrent esophageal cancer include:

1. Palliative use of any of the other therapies, including supportive care.
2. Immunotherapy and chemoimmunotherapy for patients with recurrent esophageal squamous cell carcinoma.[1-3]

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Doki Y, Ajani JA, Kato K, et al.: Nivolumab Combination Therapy in Advanced Esophageal Squamous-Cell Carcinoma. N Engl J Med 386 (5): 449-462, 2022.35108470
Luo H, Lu J, Bai Y, et al.: Effect of Camrelizumab vs Placebo Added to Chemotherapy on Survival and Progression-Free Survival in Patients With Advanced or Metastatic Esophageal Squamous Cell Carcinoma: The ESCORT-1st Randomized Clinical Trial. JAMA 326 (10): 916-925, 2021.34519801
Sun JM, Shen L, Shah MA, et al.: Pembrolizumab plus chemotherapy versus chemotherapy alone for first-line treatment of advanced oesophageal cancer (KEYNOTE-590): a randomised, placebo-controlled, phase 3 study. Lancet 398 (10302): 759-771, 2021.34454674

## Latest Updates to This Summary (03/21/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Treatment Option Overview for Esophageal Cancer

Revised text about the results of a trial that compared (1) perioperative FLOT (fluorouracil, leucovorin, oxaliplatin, and docetaxel) and surgery with (2) neoadjuvant chemoradiation therapy with the CROSS regimen (41.4 Gy of radiation therapy plus carboplatin and docetaxel) followed by surgery. The trial enrolled 438 patients with resectable esophageal adenocarcinoma (cited Hoeppner et al. as reference 35).

Revised text about the results of a randomized, open-label, international, phase III study that included 1,581 patients with HER2-negative gastric, gastroesophageal junction, or esophageal adenocarcinomas. Patients were randomly assigned to receive nivolumab and chemotherapy or chemotherapy alone (cited Janjigian et al. as reference 47).

Revised text about the results of a randomized, multicenter, double-blind, placebo-controlled, phase III trial that enrolled patients with previously untreated, HER2-negative, unresectable, advanced or recurrent gastric or gastroesophageal junction cancer, regardless of PD-L1 expression. Patients were randomly assigned to receive chemotherapy every 3 weeks and either 360 mg nivolumab or placebo (cited Boku et al. as reference 49).

Added text about the multicenter, randomized, placebo-controlled, double-blind, phase III KEYNOTE-585 trial which evaluated the role of combination neoadjuvant and adjuvant chemotherapy and immune checkpoint inhibition in patients with locally advanced, resectable gastric or gastroesophageal adenocarcinoma (cited Shitara et al. as reference 50 and level of evidence B3).

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about treatment of adult esophageal cancer. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Esophageal Cancer Treatment are:

- Andrea Bonetti, MD (Azienda ULSS 9 of the Veneto Region)
- Amit Chowdhry, MD, PhD (University of Rochester Medical Center)
- Leon Pappas, MD, PhD (Massachusetts General Hospital )

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Esophageal Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/esophageal/hp/esophageal-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389338]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).